# Childhood Extracranial Germ Cell Tumors Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood extracranial germ cell tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Childhood Extracranial Germ Cell Tumors (GCTs)

GCTs arise from primordial germ cells, which migrate during embryogenesis from the yolk sac through the mesentery to the gonads (see Figure 1).[1,2] Childhood extracranial GCTs can generally be divided into gonadal and extragonadal. These tumors can also be broadly classified as teratomas, malignant GCTs, or mixed GCTs.

Figure 1. Extracranial germ cell development from primordial germ cells. Credit: Thomas Olson, M.D.

Diagram showing extracranial germ cell development from primordial germ cells.

### Incidence

Childhood GCTs are rare in children younger than 15 years, accounting for approximately 3% of cancers in this age group.[3-6] In the fetal/neonatal age group, most extracranial GCTs are benign teratomas occurring at midline locations, including the head and neck, sacrococcyx, and retroperitoneum.[7,8] Despite the small percentage of malignant teratomas that occur in this age group, perinatal tumors have a high morbidity rate caused by hydrops fetalis and premature delivery.[8-10]

The incidence of malignant extracranial GCTs increases with the onset of puberty. These tumors represent approximately 15% of cancers in male adolescents aged 15 to 19 years and 4% of cancers in female adolescents aged 15 to 19 years.[3]

Figure 2 shows the age-incidence profile by sex for malignant extracranial/extragonadal GCTs (left panel) and malignant gonadal GCTs (right panel) between 2014 and 2018 for 23 U.S. Cancer registries that represent 66% of all U.S. children, adolescents, and young adults (blue triangles, females; green triangles, males).[3] For males, there is a peak in incidence in children younger than 2 years for both extragonadal and gonadal sites, which is followed by low rates between the ages of 2 and 12 years, and then higher rates throughout adolescence. For females, the peak in young children is present only for extragonadal tumors, with rates increasing after the age of puberty for both extragonadal and gonadal sites. However, the incidence of each tumor is lower for females during adolescence than for males during adolescence.

Figure 2. Age-incidence profiles for extracranial, extragonadal germ cell tumors (left graph) and for gonadal germ cell tumors (right graph). The blue triangles represent females, and the green triangles represent males. (See text for details.)

Drawing of two graphs showing age-incidence profiles for extracranial, extragonadal germ cell tumors (left graph) and for gonadal germ cell tumors (right graph). The blue triangles represent males, and the green triangles represent females.

The incidence of extracranial GCTs according to age group, sex, and gonadal versus extragonadal primary site is shown in Table 1.[3]

Table 1. Incidence of Extracranial Germ Cell Tumors by Age Group and Sex^a,b^

Tumor Site | Sex | Age <1 y | Ages 1–4 y | Ages 5–9 y | Ages 10–14 y | Ages 15–19 y
Extragonadal | Female | 17.7 | 2.1 | 0.1 | 0.1 | 0.7
Extragonadal | Male | 8.8 | 0.7 | 0 | 0.6 | 2.2
Gonadal | Female | 0.6 | 0.7 | 2.1 | 7.6 | 8.3
Gonadal | Male | 7 | 2.5 | 0.1 | 1.5 | 36.1

^a^Rates are per 1 million children from 2014 to 2018 for NCCR Registries, 23 U.S. Cancer registries that represent 66% of all U.S. children, adolescents, and young adults.

^b^Data from National Cancer Institute; National Childhood Cancer Registry: NCCR*Explorer.[3]

### Risk Factors

Cryptorchidism, the presence of an abdominal undescended testis, has been associated with a 10.8-fold increased risk of developing a GCT.[11] Gonadal dysgenesis, as well as the presence of Y-chromosome material in an abdominal gonad, also increases the risk of developing a gonadal GCT, especially gonadoblastoma. Gonadoblastoma is a rare gonadal tumor consisting of a mixture of germ cells and sex-cord stromal derivatives resembling immature granulosa and Sertoli cells.[12,13]

There are few data about the potential genetic or environmental risk factors associated with childhood extragonadal extracranial GCTs. Patients with the following syndromes are at an increased risk of extragonadal extracranial GCTs:

- Klinefelter syndrome: Increased risk of mediastinal GCTs.[14-17]
  Most mediastinal GCTs in adolescents and young adults occur in males, and 22% to 50% have cytogenetic changes consistent with Klinefelter syndrome.[15,18] The age of tumor presentation is younger in patients with Klinefelter syndrome, and testing all younger males for Klinefelter syndrome should be considered.[15,18]
  Patients with GCTs were identified from the Children's Oncology Group (COG) Childhood Cancer Research Network. Twenty-nine patients in the study had mediastinal primary tumors, and nine patients (31%) had Klinefelter syndrome. In the Centers for Disease Control and Prevention's large 2013 WONDER database, 3% of patients with GCTs had Klinefelter syndrome (70% were mediastinal). In comparison, 0.2% of males in the general population have Klinefelter syndrome.[17]
- Swyer syndrome: Increased risk of gonadoblastomas and seminomas.[19,20]
- Turner syndrome: Increased risk of gonadoblastomas and dysgerminomas.[21,22]

### Histological Classification of Childhood Extracranial GCTs

Childhood extracranial GCTs comprise a variety of histological diagnoses and can be broadly classified as the following:

- Teratomas.
  - Mature teratoma.
  - Immature teratoma.
- Malignant GCTs.

The histological properties of extracranial GCTs are heterogeneous and vary by primary tumor site and the sex and age of the patient.[23,24] Histologically identical GCTs that arise in younger children have different biological characteristics from those that arise in adolescents and young adults.[25]

#### Mature teratoma

Mature teratomas can occur at gonadal or at extragonadal locations. They are the most common histological subtype of childhood GCT.[10,26-28] Mature teratomas usually contain well-differentiated tissues from the ectodermal, mesodermal, and endodermal germ cell layers. Any tissue type may be found within this tumor.

Mature teratomas are benign, although some mature teratomas may secrete enzymes or hormones, including insulin, growth hormone, androgens, and prolactin.[29,30]

#### Immature teratoma

Immature teratomas contain tissues from the ectodermal, mesodermal, and endodermal germ cell layers. Immature tissues, primarily neuroepithelial, are also present. Immature teratomas are graded from 0 to 3 on the basis of the amount of immature neural tissue found in the tumor specimen.[31,32] Tumors of higher grade are more likely to have foci of yolk sac tumor.[33] Immature teratomas can exhibit malignant behavior and metastasize.

Immature teratomas occur primarily in young children at extragonadal sites and in the ovaries of girls near the age of puberty. However, there is no correlation between tumor grade and patient age.[33,34] Some immature teratomas may secrete enzymes or hormones such as vasopressin.[35]

#### Malignant GCTs

Most childhood extragonadal GCTs arise in midline sites (i.e., head and neck, sacrococcygeal, mediastinal, and retroperitoneal). The midline location may represent aberrant embryonic migration of the primordial germ cells.

GCTs contain malignant tissues of germ cell origin and, rarely, tissues of somatic origin. Isolated malignant elements may constitute a small fraction of a predominantly mature or immature teratoma.[34,36]

Malignant germ cell elements of children, adolescents, and young adults can be grouped broadly by location (see Table 2).

Table 2. Histology of Malignant Germ Cell Tumors in Children, Adolescents, and Young Adults^a^

Malignant Germ Cell Elements | | Location
Seminomatous
| Seminoma | T
| Dysgerminoma | O
| Germinoma | E
Nonseminomatous
| Yolk sac tumor (endodermal sinus tumor) | E, O, T
| Choriocarcinoma | E, O, T
| Embryonal carcinoma | E, T
| Gonadoblastoma | O
Mixed Germ Cell Tumors
| Mixed germ cell tumors | E, O, T

E = extragonadal; O = ovarian; T = testicular.

^a^Modified from Perlman et al.[37]

### GCT Biology

Childhood extracranial GCTs develop at many sites, including testicles, ovaries, mediastinum, retroperitoneum, sacrum, coccyx, and head and neck (see Figure 3).[7] The clinical features at presentation are specific for each site.

Figure 3. Extracranial germ cell tumors form in parts of the body other than the brain. This includes the testicles, ovaries, sacrococcyx (usually originating from the coccyx and including the sacrum), mediastinum, and retroperitoneum.

Extracranial germ cell tumor; drawing shows parts of the body where extracranial germ cell tumors may form, including the head and neck, mediastinum (the area between the lungs, shown in blue), retroperitoneum (the area behind the abdominal organs, shown in red), sacrum, coccyx, testicles (in males), and ovaries (in females). Also shown are the heart and peritoneum.

The following biologically distinct subtypes of GCTs are found in children and adolescents:

- Testicular GCTs.
- Ovarian GCTs.
- Extragonadal extracranial GCTs.

Biological distinctions between GCTs in children and GCTs in adults may not be absolute, and biological factors have not been shown to predict risk.[38-40]

#### Testicular GCTs

- Children (aged <11 years): During early childhood, both testicular teratomas and malignant testicular GCTs are identified. The malignant tumors are commonly composed of pure yolk sac tumor (also known as endodermal sinus tumor) and are generally diploid or tetraploid. Up to approximately 44% of testicular GCTs contain the isochromosome of the short arm of chromosome 12 (i12p) that characterizes testicular cancer in young adults.[38,41-45] Deletions of chromosomes 1p, 4q, and 6q and gains of chromosomes 1q, 3, and 20q are reported as recurring chromosomal abnormalities for this group of tumors.[43-46]
- Adolescents and young adults (aged ≥11 years): Testicular GCTs in the adolescent and young adult population almost always possess an i12p chromosomal abnormality [47-50] and are aneuploid.[41,50]

#### Ovarian GCTs

Ovarian GCTs occur primarily in adolescent and young adult females. While most ovarian GCTs are benign mature teratomas (dermoid cysts), a heterogeneous group of malignant GCTs, including immature teratomas, dysgerminomas, yolk sac tumors, and mixed GCTs, do occur in females. The malignant ovarian GCT commonly shows increased copies of the short arm of chromosome 12.[51]

#### Extragonadal extracranial GCTs

Extragonadal extracranial GCTs occur outside of the brain and gonads.

- Children (aged <11 years): These tumors typically present at birth or during early childhood. Most of these tumors are benign teratomas occurring in the sacrococcygeal region, and thus are not included in Surveillance, Epidemiology, and End Results (SEER) Program data.[52,53] Malignant yolk sac tumor histology occurs in a minority of these tumors; however, they may have cytogenetic abnormalities similar to those observed for tumors occurring in the testes of young males.[42-44,46] Mediastinal GCTs in children younger than 8 years share the same genetic gains and losses as do sacrococcygeal and testicular tumors in young children.[18,54,55]
- Older children, adolescents, and young adults (aged ≥11 years): The mediastinum is the most common primary site for extragonadal GCTs in older children and adolescents.[27]

For information about the treatment of intracranial GCTs, see Childhood Central Nervous System Germ Cell Tumors Treatment.

### Diagnostic and Staging Evaluation

Diagnostic evaluation of GCTs includes measurement of serum tumor markers and imaging studies. In suspected cases, tumor markers can suggest the diagnosis before surgery and/or biopsy. This information can be used by the multidisciplinary team to make appropriate treatment choices.

#### Tumor markers

Tumor markers are measured with each cycle of chemotherapy for all pediatric patients with malignant GCTs. After initial chemotherapy, tumor markers may show a transient elevation.[56]

Common tumor markers include the following:

- Alpha-fetoprotein (AFP).
  The fetal liver produces AFP, and during the first year of life, infants have elevated serum AFP levels, which are not associated with the presence of a GCT. Normal ranges have been described.[57,58] The serum half-life of AFP is 5 to 7 days.
  Yolk sac tumors produce AFP. Most children with malignant GCTs will have a component of yolk sac tumor and have elevations of AFP levels,[59 ,60] which are serially monitored during treatment to help assess response to therapy.[34,36,59] Benign teratomas and immature teratomas may produce small elevations of AFP and beta-human chorionic gonadotropin (beta-hCG).
  A COG study measured AFP levels in children who received chemotherapy for GCTs. AFP decline was defined as automatically satisfactory if AFP normalized after two cycles of chemotherapy and was calculated satisfactory if the AFP half-life decline was less than or equal to 7 days after the start of chemotherapy. Other decline in AFP was defined as unsatisfactory.[61][Level of evidence C1]
  - The cumulative incidence of relapse was 11% for patients with a satisfactory decline in AFP (n = 117) and 38% for patients with an unsatisfactory decline in AFP (n = 14).
- Beta-hCG.
  Beta-hCG is produced by all choriocarcinomas and by some germinomas (seminomas and dysgerminomas) and embryonal carcinomas, resulting in elevated serum levels of these substances. The serum half-life of beta-hCG is 1 to 2 days.
- MicroRNAs.
  In a prospective multicentric study, the serum level of microRNA-371a-3p was shown to be a sensitive and specific biomarker for adult testicular GCTs.[62] The study included 616 patients with GCTs of varying histologies and 258 controls without malignant GCTs. Elevation of microRNA-371a-3p levels was noted in all malignant histologies, including seminomas. Normal controls and patients with benign teratomas did not have the biomarker elevation. MicroRNA-371a-3p levels were related to tumor volume, and the levels decreased in response to chemotherapy. More studies about microRNA-371a-3p are needed to assess its use in patients with pediatric GCTs.

#### Imaging tests

Imaging tests may include the following:

- Computed tomography (CT) scan of the chest.
- CT or magnetic resonance imaging (MRI) of the primary site.
- Radionuclide bone scan, if clinically indicated.
- MRI of the brain, if clinically indicated.

### Prognostic Factors

Prognostic factors for extracranial GCTs depend on many patient and tumor characteristics and include the following (obtained from historical national GCT trials):[59,63-65]

- Age (e.g., young children vs. adolescents).
- Stage of disease.
- Primary site of disease.
- Histology (e.g., seminomatous vs. nonseminomatous).
- Tumor marker decline (AFP and beta-hCG) in response to therapy.
- Presence of gonadal dysgenesis.

To better identify prognostic factors, data from five U.S. trials and two U.K. trials for malignant extracranial GCTs in children and adolescents were merged by the Malignant Germ Cell Tumor International Collaborative. The goal was to ascertain the important prognostic factors in 519 young patients who received chemotherapy, incorporating age at diagnosis, stage, and site of primary tumor, along with pretreatment AFP level and histology.[66][Level of evidence C2] In this age-focused investigation of these factors in young children and adolescents, outcomes included the following (see Figure 4):[66]

- Patients aged 11 years and older with stage III or stage IV extragonadal disease or stage IV ovarian disease had a less than 70% likelihood of long-term disease-free survival, ranging from 40% (extragonadal stage IV) to 67% (ovarian stage IV).
- Boys (aged 11 years and older) with International Germ Cell Consensus Classification [67] intermediate-risk or poor-risk features also had inferior outcomes.
- Presence of a yolk sac tumor predicted better outcome, but it did not achieve statistical significance at the .05 level.
- Preoperative AFP levels were not prognostic. Postoperative AFP levels were prognostic in adult men.[67]

A subsequent study used a database of 11 GCT trials and identified 593 patients with metastatic testicular, mediastinal, or retroperitoneal GCTs. The distribution of patients by age groups included 90 children (aged 0 to <11 years), 109 adolescents (aged 11 to <18 years), and 394 young adults (aged 18 to ≤30 years).[67]; [68][Level of evidence C1]

- The 5-year event-free survival (EFS) rate was lower for adolescents (72%; 95% confidence interval [CI], 62%–79%) than it was for children (90%; 95% CI, 81%–95%; P = .003) or young adults (88%; 95% CI, 84%–91%; P = .0002).
- After adjusting for the International Germ Cell Consensus Classification risk group,[67] only the difference in EFS between adolescents and children remained significant (hazard ratio, 0.30; P = .001).

Although few pediatric data exist, adult studies have shown that an unsatisfactory decline of elevated tumor markers after the first cycle of chemotherapy is a poor prognostic finding.[69,70]

The presence of gonadal dysgenesis in patients with ovarian nondysgerminomas is associated with worse outcomes. In a report from the COG AGCT0132 (https://www.cancer.gov/clinicaltrials/NCT00053352) study, seven patients with gonadal dysgenesis and ovarian nondysgerminomas had an estimated 3-year EFS rate of 67%, compared with 89% for 100 patients with nondysgerminoma ovarian tumors who did not have gonadal dysgenesis.[13] These dysgenetic gonads contain Y-chromosome material, and intra-abdominal gonads with Y-chromosome material are at increased risk of tumor development.[12,71] In contrast to nondysgerminomas, gonadal dysgenesis was identified in 7 of 48 patients with ovarian dysgerminomas in a report from the French Society of Pediatric Oncology. With a medium follow-up of 14 years, all patients survived.[72]

Figure 4. Predicted fraction of pediatric germ cell tumors cured by site, age, and stage using parameter estimates from cure model. Reprinted with permission. © 2015 American Society of Clinical Oncology. All rights reserved. Frazier AL, Hale JP, Rodriguez-Galindo C, et al: Revised risk classification for pediatric extracranial germ cell tumors based on 25 years of clinical trial data from the United Kingdom and United States. J Clin Oncol, Vol. 33 (Issue 2), 2015: 195-201.

Table showing the predicted fraction of pediatric germ cell tumors cured by site, age, and stage using parameter estimates from Cure model.

For more information about prognosis and prognostic factors for childhood extragonadal extracranial GCTs, see the sections on Treatment of Mature and Immature Teratomas in Children, Treatment of Malignant Gonadal GCTs in Children, and Treatment of Malignant Extragonadal Extracranial GCTs in Children.

### Follow-up After Treatment

The following tests and procedures may be performed at the physician's discretion for monitoring children with extracranial GCTs:

- AFP and beta-hCG. Monitor AFP and beta-hCG levels monthly for 6 months (period of highest risk) and then every 3 months, for a total of 2 years (3 years for sacrococcygeal teratoma).
  A COG trial of patients with low-risk and intermediate-risk GCTs reported the following results:[73][Level of evidence C2]
  - Forty-eight patients with elevated tumor markers at diagnosis relapsed during the surveillance phase.
  - At the time of relapse (after central review), 47 of 48 (98%) relapses were detected by tumor marker elevation.
- Imaging tests.
  - MRI/CT may be performed at the completion of therapy.
  - Guided imaging of the primary site may be performed every 3 months for the first year and every six months for the second year. Seminomas and dysgerminomas may recur later, so the imaging schedule may need to be extended.
  - Chest x-ray annually.
  - When tumor markers are normal at diagnosis, ultrasonography or CT/MRI may be performed every 3 months for 2 years and then annually for 5 years for germinomas.

Dramatic improvements in survival have been achieved for children and adolescents with cancer.[74] Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3,74,75] During the period from 2002 to 2010, cancer mortality continued to decrease by 2.4% per year for children and adolescents with gonadal tumors, as compared with the period from 1975 to 1998 (plateauing from 1998 to 2001).[74] Childhood and adolescent cancer survivors require close monitoring because late effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects of childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

### References

Dehner LP: Gonadal and extragonadal germ cell neoplasia of childhood. Hum Pathol 14 (6): 493-511, 1983.6343221 83211763
McIntyre A, Gilbert D, Goddard N, et al.: Genes, chromosomes and the development of testicular germ cell tumors of adolescents and adults. Genes Chromosomes Cancer 47 (7): 547-57, 2008.18381640
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Poynter JN, Amatruda JF, Ross JA: Trends in incidence and survival of pediatric and adolescent patients with germ cell tumors in the United States, 1975 to 2006. Cancer 116 (20): 4882-91, 2010.20597129
Kaatsch P, Häfner C, Calaminus G, et al.: Pediatric germ cell tumors from 1987 to 2011: incidence rates, time trends, and survival. Pediatrics 135 (1): e136-43, 2015.25489016
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Dharmarajan H, Rouillard-Bazinet N, Chandy BM: Mature and immature pediatric head and neck teratomas: A 15-year review at a large tertiary center. Int J Pediatr Otorhinolaryngol 105: 43-47, 2018.29447817
Isaacs H: Perinatal (fetal and neonatal) germ cell tumors. J Pediatr Surg 39 (7): 1003-13, 2004.15213888
Heerema-McKenney A, Harrison MR, Bratton B, et al.: Congenital teratoma: a clinicopathologic study of 22 fetal and neonatal tumors. Am J Surg Pathol 29 (1): 29-38, 2005.15613854
Alexander VR, Manjaly JG, Pepper CM, et al.: Head and neck teratomas in children--A series of 23 cases at Great Ormond Street Hospital. Int J Pediatr Otorhinolaryngol 79 (12): 2008-14, 2015.26611341
Johnson KJ, Ross JA, Poynter JN, et al.: Paediatric germ cell tumours and congenital abnormalities: a Children's Oncology Group study. Br J Cancer 101 (3): 518-21, 2009.19603020
Huang H, Wang C, Tian Q: Gonadal tumour risk in 292 phenotypic female patients with disorders of sex development containing Y chromosome or Y-derived sequence. Clin Endocrinol (Oxf) 86 (4): 621-627, 2017.27862157
Dicken BJ, Billmire DF, Krailo M, et al.: Gonadal dysgenesis is associated with worse outcomes in patients with ovarian nondysgerminomatous tumors: A report of the Children's Oncology Group AGCT 0132 study. Pediatr Blood Cancer 65 (4): , 2018.29286555
Dexeus FH, Logothetis CJ, Chong C, et al.: Genetic abnormalities in men with germ cell tumors. J Urol 140 (1): 80-4, 1988.2837589 88245450
Nichols CR, Heerema NA, Palmer C, et al.: Klinefelter's syndrome associated with mediastinal germ cell neoplasms. J Clin Oncol 5 (8): 1290-4, 1987.3040921 87310573
Lachman MF, Kim K, Koo BC: Mediastinal teratoma associated with Klinefelter's syndrome. Arch Pathol Lab Med 110 (11): 1067-71, 1986.3778123 87048001
Williams LA, Pankratz N, Lane J, et al.: Klinefelter syndrome in males with germ cell tumors: A report from the Children's Oncology Group. Cancer 124 (19): 3900-3908, 2018.30291793
Schneider DT, Schuster AE, Fritsch MK, et al.: Genetic analysis of mediastinal nonseminomatous germ cell tumors in children and adolescents. Genes Chromosomes Cancer 34 (1): 115-25, 2002.11921289 21917062
Coutin AS, Hamy A, Fondevilla M, et al.: [Pure 46XY gonadal dysgenesis] J Gynecol Obstet Biol Reprod (Paris) 25 (8): 792-6, 1996.9026505 97161638
Amice V, Amice J, Bercovici JP, et al.: Gonadal tumor and H-Y antigen in 46,XY pure gonadal dysgenesis. Cancer 57 (7): 1313-7, 1986.3948114 86133098
Tanaka Y, Sasaki Y, Tachibana K, et al.: Gonadal mixed germ cell tumor combined with a large hemangiomatous lesion in a patient with Turner's syndrome and 45,X/46,X, +mar karyotype. Arch Pathol Lab Med 118 (11): 1135-8, 1994.7979900
Kota SK, Gayatri K, Pani JP, et al.: Dysgerminoma in a female with turner syndrome and Y chromosome material: A case-based review of literature. Indian J Endocrinol Metab 16 (3): 436-40, 2012.22629515
Hawkins EP: Germ cell tumors. Am J Clin Pathol 109 (4 Suppl 1): S82-8, 1998.9533752
Schneider DT, Calaminus G, Koch S, et al.: Epidemiologic analysis of 1,442 children and adolescents registered in the German germ cell tumor protocols. Pediatr Blood Cancer 42 (2): 169-75, 2004.14752882
Horton Z, Schlatter M, Schultz S: Pediatric germ cell tumors. Surg Oncol 16 (3): 205-13, 2007.17719771
Göbel U, Calaminus G, Engert J, et al.: Teratomas in infancy and childhood. Med Pediatr Oncol 31 (1): 8-15, 1998.9607423 98268439
Rescorla FJ: Pediatric germ cell tumors. Semin Surg Oncol 16 (2): 144-58, 1999.9988869
Harms D, Zahn S, Göbel U, et al.: Pathology and molecular biology of teratomas in childhood and adolescence. Klin Padiatr 218 (6): 296-302, 2006 Nov-Dec.17080330
Tomlinson MW, Alaverdian AA, Alaverdian V: Testosterone-producing benign cystic teratoma with virilism. A case report. J Reprod Med 41 (12): 924-6, 1996.8979209
Kallis P, Treasure T, Holmes SJ, et al.: Exocrine pancreatic function in mediastinal teratomata: an aid to preoperative diagnosis? Ann Thorac Surg 54 (4): 741-3, 1992.1384444
Norris HJ, Zirkin HJ, Benson WL: Immature (malignant) teratoma of the ovary: a clinical and pathologic study of 58 cases. Cancer 37 (5): 2359-72, 1976.1260722 76163013
O'Connor DM, Norris HJ: The influence of grade on the outcome of stage I ovarian immature (malignant) teratomas and the reproducibility of grading. Int J Gynecol Pathol 13 (4): 283-9, 1994.7814189 95113613
Heifetz SA, Cushing B, Giller R, et al.: Immature teratomas in children: pathologic considerations: a report from the combined Pediatric Oncology Group/Children's Cancer Group. Am J Surg Pathol 22 (9): 1115-24, 1998.9737245 98407263
Marina NM, Cushing B, Giller R, et al.: Complete surgical excision is effective treatment for children with immature teratomas with or without malignant elements: A Pediatric Oncology Group/Children's Cancer Group Intergroup Study. J Clin Oncol 17 (7): 2137-43, 1999.10561269 20029998
Lam SK, Cheung LP: Inappropriate ADH secretion due to immature ovarian teratoma. Aust N Z J Obstet Gynaecol 36 (1): 104-5, 1996.8775270
Göbel U, Calaminus G, Schneider DT, et al.: The malignant potential of teratomas in infancy and childhood: the MAKEI experiences in non-testicular teratoma and implications for a new protocol. Klin Padiatr 218 (6): 309-14, 2006 Nov-Dec.17080332
Perlman EJ, Hawkins EP: Pediatric germ cell tumors: protocol update for pathologists. Pediatr Dev Pathol 1 (4): 328-35, 1998 Jul-Aug.10463297
Palmer RD, Foster NA, Vowler SL, et al.: Malignant germ cell tumours of childhood: new associations of genomic imbalance. Br J Cancer 96 (4): 667-76, 2007.17285132
Palmer RD, Barbosa-Morais NL, Gooding EL, et al.: Pediatric malignant germ cell tumors show characteristic transcriptome profiles. Cancer Res 68 (11): 4239-47, 2008.18519683
Poynter JN, Hooten AJ, Frazier AL, et al.: Associations between variants in KITLG, SPRY4, BAK1, and DMRT1 and pediatric germ cell tumors. Genes Chromosomes Cancer 51 (3): 266-71, 2012.22072546
Oosterhuis JW, Castedo SM, de Jong B, et al.: Ploidy of primary germ cell tumors of the testis. Pathogenetic and clinical relevance. Lab Invest 60 (1): 14-21, 1989.2536126 89095727
Silver SA, Wiley JM, Perlman EJ: DNA ploidy analysis of pediatric germ cell tumors. Mod Pathol 7 (9): 951-6, 1994.7892165 95199223
Perlman EJ, Cushing B, Hawkins E, et al.: Cytogenetic analysis of childhood endodermal sinus tumors: a Pediatric Oncology Group study. Pediatr Pathol 14 (4): 695-708, 1994 Jul-Aug.7971587 95061743
Schneider DT, Schuster AE, Fritsch MK, et al.: Genetic analysis of childhood germ cell tumors with comparative genomic hybridization. Klin Padiatr 213 (4): 204-11, 2001 Jul-Aug.11528555 21419551
Bussey KJ, Lawce HJ, Olson SB, et al.: Chromosome abnormalities of eighty-one pediatric germ cell tumors: sex-, age-, site-, and histopathology-related differences--a Children's Cancer Group study. Genes Chromosomes Cancer 25 (2): 134-46, 1999.10337997
Perlman EJ, Valentine MB, Griffin CA, et al.: Deletion of 1p36 in childhood endodermal sinus tumors by two-color fluorescence in situ hybridization: a pediatric oncology group study. Genes Chromosomes Cancer 16 (1): 15-20, 1996.9162192 97013657
Rodriguez E, Houldsworth J, Reuter VE, et al.: Molecular cytogenetic analysis of i(12p)-negative human male germ cell tumors. Genes Chromosomes Cancer 8 (4): 230-6, 1993.7512366 94206868
Bosl GJ, Ilson DH, Rodriguez E, et al.: Clinical relevance of the i(12p) marker chromosome in germ cell tumors. J Natl Cancer Inst 86 (5): 349-55, 1994.8308927 94141962
Mostert MC, Verkerk AJ, van de Pol M, et al.: Identification of the critical region of 12p over-representation in testicular germ cell tumors of adolescents and adults. Oncogene 16 (20): 2617-27, 1998.9632138 98293927
van Echten J, Oosterhuis JW, Looijenga LH, et al.: No recurrent structural abnormalities apart from i(12p) in primary germ cell tumors of the adult testis. Genes Chromosomes Cancer 14 (2): 133-44, 1995.8527395 96108406
Riopel MA, Spellerberg A, Griffin CA, et al.: Genetic analysis of ovarian germ cell tumors by comparative genomic hybridization. Cancer Res 58 (14): 3105-10, 1998.9679978 98343572
Malogolowkin MH, Mahour GH, Krailo M, et al.: Germ cell tumors in infancy and childhood: a 45-year experience. Pediatr Pathol 10 (1-2): 231-41, 1990.2156245 90192504
Marsden HB, Birch JM, Swindell R: Germ cell tumours of childhood: a review of 137 cases. J Clin Pathol 34 (8): 879-83, 1981.6268666 82008224
Dal Cin P, Drochmans A, Moerman P, et al.: Isochromosome 12p in mediastinal germ cell tumor. Cancer Genet Cytogenet 42 (2): 243-51, 1989.2790759 90002866
Aly MS, Dal Cin P, Jiskoot P, et al.: Competitive in situ hybridization in a mediastinal germ cell tumor. Cancer Genet Cytogenet 73 (1): 53-6, 1994.8174074 94228462
Vogelzang NJ, Lange PH, Goldman A, et al.: Acute changes of alpha-fetoprotein and human chorionic gonadotropin during induction chemotherapy of germ cell tumors. Cancer Res 42 (11): 4855-61, 1982.6181870
Wu JT, Book L, Sudar K: Serum alpha fetoprotein (AFP) levels in normal infants. Pediatr Res 15 (1): 50-2, 1981.6163129
Blohm ME, Vesterling-Hörner D, Calaminus G, et al.: Alpha 1-fetoprotein (AFP) reference values in infants up to 2 years of age. Pediatr Hematol Oncol 15 (2): 135-42, 1998 Mar-Apr.9592840
Mann JR, Raafat F, Robinson K, et al.: The United Kingdom Children's Cancer Study Group's second germ cell tumor study: carboplatin, etoposide, and bleomycin are effective treatment for children with malignant extracranial germ cell tumors, with acceptable toxicity. J Clin Oncol 18 (22): 3809-18, 2000.11078494 20530736
Marina N, Fontanesi J, Kun L, et al.: Treatment of childhood germ cell tumors. Review of the St. Jude experience from 1979 to 1988. Cancer 70 (10): 2568-75, 1992.1384951 93046025
O'Neill AF, Xia C, Krailo MD, et al.: α-Fetoprotein as a predictor of outcome for children with germ cell tumors: A report from the Malignant Germ Cell International Consortium. Cancer 125 (20): 3649-3656, 2019.31355926
Dieckmann KP, Radtke A, Geczi L, et al.: Serum Levels of MicroRNA-371a-3p (M371 Test) as a New Biomarker of Testicular Germ Cell Tumors: Results of a Prospective Multicentric Study. J Clin Oncol 37 (16): 1412-1423, 2019.30875280
Rogers PC, Olson TA, Cullen JW, et al.: Treatment of children and adolescents with stage II testicular and stages I and II ovarian malignant germ cell tumors: A Pediatric Intergroup Study--Pediatric Oncology Group 9048 and Children's Cancer Group 8891. J Clin Oncol 22 (17): 3563-9, 2004.15337806
Cushing B, Giller R, Cullen JW, et al.: Randomized comparison of combination chemotherapy with etoposide, bleomycin, and either high-dose or standard-dose cisplatin in children and adolescents with high-risk malignant germ cell tumors: a pediatric intergroup study--Pediatric Oncology Group 9049 and Children's Cancer Group 8882. J Clin Oncol 22 (13): 2691-700, 2004.15226336
Göbel U, Schneider DT, Calaminus G, et al.: Multimodal treatment of malignant sacrococcygeal germ cell tumors: a prospective analysis of 66 patients of the German cooperative protocols MAKEI 83/86 and 89. J Clin Oncol 19 (7): 1943-50, 2001.11283126
Frazier AL, Hale JP, Rodriguez-Galindo C, et al.: Revised risk classification for pediatric extracranial germ cell tumors based on 25 years of clinical trial data from the United Kingdom and United States. J Clin Oncol 33 (2): 195-201, 2015.25452439
International Germ Cell Consensus Classification: a prognostic factor-based staging system for metastatic germ cell cancers. International Germ Cell Cancer Collaborative Group. J Clin Oncol 15 (2): 594-603, 1997.9053482 97178749
Shaikh F, Stark D, Fonseca A, et al.: Outcomes of adolescent males with extracranial metastatic germ cell tumors: A report from the Malignant Germ Cell Tumor International Consortium. Cancer 127 (2): 193-202, 2021.33079404
Motzer RJ, Nichols CJ, Margolin KA, et al.: Phase III randomized trial of conventional-dose chemotherapy with or without high-dose chemotherapy and autologous hematopoietic stem-cell rescue as first-line treatment for patients with poor-prognosis metastatic germ cell tumors. J Clin Oncol 25 (3): 247-56, 2007.17235042
Fizazi K, Pagliaro L, Laplanche A, et al.: Personalised chemotherapy based on tumour marker decline in poor prognosis germ-cell tumours (GETUG 13): a phase 3, multicentre, randomised trial. Lancet Oncol 15 (13): 1442-50, 2014.25456363
Thorup J, McLachlan R, Cortes D, et al.: What is new in cryptorchidism and hypospadias--a critical review on the testicular dysgenesis hypothesis. J Pediatr Surg 45 (10): 2074-86, 2010.20920735
Duhil de Bénazé G, Pacquement H, Faure-Conter C, et al.: Paediatric dysgerminoma: Results of three consecutive French germ cell tumours clinical studies (TGM-85/90/95) with late effects study. Eur J Cancer 91: 30-37, 2018.29331749
Fonseca A, Xia C, Lorenzo AJ, et al.: Detection of Relapse by Tumor Markers Versus Imaging in Children and Adolescents With Nongerminomatous Malignant Germ Cell Tumors: A Report From the Children's Oncology Group. J Clin Oncol 37 (5): 396-402, 2019.30576269
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.

## Stage Information for Childhood Extracranial GCTs

As with other childhood solid tumors, stage of disease at diagnosis directly impacts the outcome of patients with malignant germ cell tumors (GCTs).[1-3] The most commonly used staging systems in the United States are as follows:[4]

- Testicular GCT Staging (Children's Oncology Group [COG]).
- Ovarian GCT Staging (COG).
- Ovarian GCT Staging (International Federation of Gynecology and Obstetrics [FIGO]).
- Extragonadal Extracranial GCT Staging (COG).

### Testicular GCT Staging From COG (Patients Aged <11 Years)

Table 3 describes the testicular GCT staging for males younger than 11 years from the COG AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) trial.

Table 3. Testicular GCT Staging From the COG AGCT1531 Trial^a,b^

Stage | Extent of Disease
I | (1) Tumor limited to testis (testes) with negative microscopic margins, completely resected by high inguinal orchiectomy;
I | (2) Tumor capsule cannot have been violated by needle biopsy, incisional biopsy, or tumor rupture. Patients who have undergone scrotal orchiectomy without violation of the tumor capsule and with removal of the spermatic cord to the level of the internal ring are stage I. Patients who have undergone excisional biopsy for frozen section analysis with complete orchiectomy and cord excision at the same operation can be designated stage I;
I | (3) No clinical, radiographic, or histological evidence of disease beyond the testes;
I | (4) Lymph nodes all <1 cm maximum short-axis diameter on multiplanar imaging. (Note: Nodes 1–2 cm require short-interval follow-up in 4–6 weeks. If nodes are unchanged at 4–6 weeks [1–2 cm], consider biopsy or transfer to chemotherapy arm. If growing, transfer to chemotherapy arm.)
II | (1) Complete orchiectomy with violation of the tumor capsule in situ (includes preoperative needle biopsy and incisional biopsy or intraoperative tumor capsule rupture);
II | (2) Microscopic disease in scrotum or high in spermatic cord (<5 cm from proximal end). Failure of tumor markers to normalize or decrease with an appropriate half-life;
II | (3) Lymph nodes negative.
III | (1) Retroperitoneal lymph node involvement, but no visceral or extra-abdominal involvement;
III | (2) Lymph nodes ≥2 cm or lymph nodes >1 cm but <2 cm on short axis by multiplanar imaging CT that fail to resolve on re-imaging at 4–6 weeks.
IV | (1) Distant metastases, including liver, lung, bone, and brain.

COG = Children's Oncology Group; CT = computed tomography; GCT = germ cell tumor.

^a^Males younger than 50 years are eligible for the AGCT1531 trial.

^b^COG trials include patients younger than 15 years with testicular GCT. Although data are scarce, patients between the ages of 11 years and 15 years might be more appropriately staged according to adult testicular guidelines. For more information about the staging of adult testicular GCTs, see Testicular Cancer Treatment.

### Testicular GCT Staging (Patients Aged ≥11 Years)

Retroperitoneal lymph node dissection has not been required in pediatric germ cell trials to stage disease in males younger than 15 years. Data on adolescent males with testicular GCTs are limited. Retroperitoneal lymph node dissection is used for both staging and treatment in adult testicular GCT trials.[5]

In males older than 15 years, there are only stage I tumors and metastatic tumors. Metastatic tumors are assigned risk according to the International Germ Cell Consensus Classification.[6]

For more information about the American Joint Committee on Cancer staging criteria for testicular GCT in males aged 11 years and older, see Testicular Cancer Treatment.

### Ovarian GCT Staging From COG

Table 4 describes the ovarian GCT staging for females younger than 11 years from the COG AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) trial.

Table 4. Ovarian GCT Staging From the COG AGCT1531 Trial^a^

Stage | Extent of Disease
I | (1) Ovarian tumor removed without violation of the tumor capsule;
I | (2) No evidence of partial or complete capsular penetration;
I | (3) Peritoneal cytology negative for malignant cells;
I | (4) Peritoneal surfaces and omentum documented to be free of disease in operative note or biopsied with negative histology if abnormal in appearance;
I | (5) Lymph nodes all <1 cm by short-axis diameter on multiplanar imaging or biopsy proven negative. (Note: Nodes 1–2 cm require short-interval follow-up in 4–6 weeks. If nodes are unchanged at 4–6 weeks [1–2 cm], consider biopsy or transfer to chemotherapy arm. If growing, transfer to chemotherapy arm.)
II | (1) Ovarian tumor completely removed but with preoperative biopsy, violation of tumor capsule in situ, or presence of partial or complete capsule penetration at histology;
II | (2) Tumor >10 cm removed laparoscopically;
II | (3) Tumor morcellated for removal so that capsule cannot be assessed for penetration;
II | (4) Peritoneal cytology must be negative for malignant cells;
II | (5) Lymph nodes, peritoneal surfaces, and omentum documented to be free of disease in operative note or biopsied with negative histology if abnormal in appearance.
III | (1) Lymph nodes ≥2 cm or lymph nodes >1 cm but <2 cm on short axis by multiplanar imaging CT that fail to resolve on re-imaging at 4–6 weeks;
III | (2) Ovarian tumor biopsy or removal with gross residual;
III | (3) Positive peritoneal fluid cytology for malignant cells, including immature teratoma;
III | (4) Lymph nodes positive for malignant cells, including immature teratoma;
III | (5) Peritoneal implants positive for malignant cells, including immature teratoma.
III–X | Patients otherwise stage I or II by COG criteria but with the following:
III–X | | (1) Failure to collect peritoneal cytology;
III–X | | (2) Failure to biopsy lymph nodes >1 cm on short axis by multiplanar imaging;
III–X | | (3) Failure to sample abnormal peritoneal surfaces or omentum; or
III–X | | (4) Delayed completion of surgical staging at a second procedure for patients who had only oophorectomy at first procedure.
IV | (1) Metastatic disease to the parenchyma of the liver (surface implants are stage III) or metastases outside the peritoneal cavity to any other viscera (bone, lung, or brain) and pleural fluid with positive cytology.

COG = Children's Oncology Group; CT = computed tomography; GCT = germ cell tumor.

^a^Bilateral ovarian tumors may be any stage as long as other stage criteria are met. Tumor staged according to ovary with most advanced features.

### Ovarian GCT Staging From FIGO

Another ovarian GCT staging system used frequently by gynecologic oncologists is the FIGO staging system, which is based on adequate surgical staging at the time of diagnosis.[7] This system has also been used by some pediatric centers,[2] is most applicable to females older than 11 years, and is described in Table 5. For more information about the FIGO staging system, see Ovarian Germ Cell Tumors Treatment.

Table 5. FIGO Staging for Carcinoma of the Ovary^a^

Stage | | Description
I | | Tumor confined to the ovary.
IA | | Tumor limited to one ovary (capsule intact); no tumor on surface of the ovary; no malignant cells in the ascites or peritoneal washings.
IB | | Tumor limited to both ovaries (capsules intact); no tumor on surface of the ovary; no malignant cells in the ascites or peritoneal washings.
IC | | Tumor limited to one or both ovaries, with any of the following:
| IC1 | Surgical spill.
| IC2 | Capsule ruptured before surgery or tumor on the surface of the ovary.
| IC3 | Malignant cells in the ascites or peritoneal washings.
II | | Tumor involves one or both ovaries with pelvic extension (below pelvic brim) or primary peritoneal cancer.
IIA | | Extension and/or implants on uterus and/or fallopian tubes.
IIB | | Extension to other pelvic intraperitoneal tissues.
III | | Tumor involves one or both ovaries or primary peritoneal cancer, with cytologically or histologically confirmed spread to the peritoneum outside the pelvis and/or metastasis to the retroperitoneal lymph nodes.
IIIA1 | | Positive retroperitoneal lymph nodes only (cytologically or histologically proven):
| IIIA1(i) | Lymph nodes ≤10 mm in greatest dimension.
| IIIA1(ii) | Lymph nodes >10 mm in greatest dimension.
IIIA2 | | Microscopic extrapelvic (above the pelvic brim) peritoneal involvement with or without positive retroperitoneal lymph nodes.
IIIB | | Macroscopic peritoneal metastasis beyond the pelvis ≤2 cm in greatest dimension, with or without metastasis to the retroperitoneal lymph nodes
IIIC | | Macroscopic peritoneal metastasis beyond the pelvis >2 cm in greatest dimension, with or without metastasis to the retroperitoneal lymph nodes (includes extension of tumor to capsule of liver and spleen without parenchymal involvement of either organ).
IV | | Distant metastasis excluding peritoneal metastases.
IVA | | Pleural effusion with positive cytology.
IVB | | Parenchymal metastases and metastases to extra-abdominal organs (including inguinal lymph nodes and lymph nodes outside of the abdominal cavity).

FIGO = International Federation of Gynecology and Obstetrics.

^a^Adapted from Berek et al.[8]

The ovarian staging systems described above require adherence to specific surgical guidelines. However, in a pediatric intergroup trial, guidelines were followed in only 2 of 131 patients with ovarian tumors.[9] In a single-institution retrospective study, guidelines were followed in only 2 of 44 patients with ovarian tumors.[10]

### Extragonadal Extracranial GCT Staging From COG

Table 6 describes the extragonadal extracranial GCT staging from the COG AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) trial.

Table 6. Extragonadal Extracranial GCT Staging From the COG AGCT1531 Trial

Stage | Extent of Disease
I | (1) Complete resection at any site, including coccygectomy for sacrococcygeal site;
I | (2) Must have negative tumor margins and intact capsule;
I | (3) For any tumors involving abdominal cavity or retroperitoneum, peritoneal fluid or washings must be done for cytology and be negative for malignant cells;
I | (4) Lymph nodes ≤1 cm by imaging of abdomen, pelvis, and chest. (Note: Nodes 1–2 cm require short-interval follow-up in 4–6 weeks. If nodes are unchanged at 4–6 weeks [1–2 cm], consider biopsy or transfer to chemotherapy arm. If growing, transfer to chemotherapy arm. For any tumors involving abdominal cavity or retroperitoneum, peritoneal fluid or washings must be done for cytology and be negative for malignant cells.)
II | (1) Microscopic residual disease;
II | (2) Gross-total resection with preoperative biopsy, intraoperative biopsy, microscopic residual disease, or pathological evidence of capsular disruption;
II | (3) Lymph nodes negative by abdomen, pelvic, and chest imaging. Peritoneal fluid negative.
III | (1) Gross residual disease or biopsy only;
III | (2) Lymph nodes positive with tumor resection. Lymph nodes ≥2 cm or lymph nodes >1 cm but <2 cm on short axis by multiplanar imaging CT that fail to resolve on re-imaging at 4–6 weeks.
IV | Distant metastases, including liver, lung, bone, and brain.

COG = Children's Oncology Group; CT = computed tomography; GCT = germ cell tumor.

### References

Ablin AR, Krailo MD, Ramsay NK, et al.: Results of treatment of malignant germ cell tumors in 93 children: a report from the Childrens Cancer Study Group. J Clin Oncol 9 (10): 1782-92, 1991.1717667 92014151
Mann JR, Pearson D, Barrett A, et al.: Results of the United Kingdom Children's Cancer Study Group's malignant germ cell tumor studies. Cancer 63 (9): 1657-67, 1989.2467734 89195012
Marina N, Fontanesi J, Kun L, et al.: Treatment of childhood germ cell tumors. Review of the St. Jude experience from 1979 to 1988. Cancer 70 (10): 2568-75, 1992.1384951 93046025
Brodeur GM, Howarth CB, Pratt CB, et al.: Malignant germ cell tumors in 57 children and adolescents. Cancer 48 (8): 1890-8, 1981.7284981 82025321
de Wit R, Fizazi K: Controversies in the management of clinical stage I testis cancer. J Clin Oncol 24 (35): 5482-92, 2006.17158533
International Germ Cell Consensus Classification: a prognostic factor-based staging system for metastatic germ cell cancers. International Germ Cell Cancer Collaborative Group. J Clin Oncol 15 (2): 594-603, 1997.9053482 97178749
Cannistra SA: Cancer of the ovary. N Engl J Med 329 (21): 1550-9, 1993.8155119 94019647
Berek JS, Renz M, Kehoe S, et al.: Cancer of the ovary, fallopian tube, and peritoneum: 2021 update. Int J Gynaecol Obstet 155 (Suppl 1): 61-85, 2021.34669199
Billmire D, Vinocur C, Rescorla F, et al.: Outcome and staging evaluation in malignant germ cell tumors of the ovary in children and adolescents: an intergroup study. J Pediatr Surg 39 (3): 424-9; discussion 424-9, 2004.15017564
Madenci AL, Levine BS, Laufer MR, et al.: Poor adherence to staging guidelines for children with malignant ovarian tumors. J Pediatr Surg 51 (9): 1513-7, 2016.27125730

## Treatment Option Overview for Childhood Extracranial GCTs

Childhood extracranial germ cell tumors (GCTs) are very heterogenous.

On the basis of clinical factors and tumor histology, appropriate treatment for extracranial GCTs may involve one of the following:

- Surgical resection followed by careful monitoring for disease recurrence.
- Initial surgical resection followed by platinum-based chemotherapy.
- Diagnostic tumor biopsy and preoperative platinum-based chemotherapy followed by definitive tumor resection.[1]

To maximize long-term survival while minimizing treatment-related long-term sequelae (e.g., secondary leukemias, infertility, hearing loss, and renal dysfunction), children with extracranial malignant GCTs need to be cared for at pediatric cancer centers with experience treating these rare tumors.

### Treatment Options for Childhood Extracranial GCTs by Histological Type

Table 7 provides an overview of treatment options for children with extracranial GCTs. Specific details of treatment by primary site and clinical condition are described in subsequent sections.

Table 7. Treatment Options for Childhood Extracranial Germ Cell Tumors (GCTs)

Histology | | | Treatment Options
Mature teratoma
| Sacrococcygeal site | | Surgery and observation
| Nonsacrococcygeal site | | Surgery and observation
Immature teratoma | | | Surgery and observation (stage I)
Immature teratoma | | | Surgery and observation or chemotherapy (stages I–IV) ^a^
Malignant gonadal GCTs in children:
| Childhood malignant testicular GCTs:
| | Malignant testicular GCTs in prepubertal males | Surgery and observation (stage I)
| | Malignant testicular GCTs in prepubertal males | Surgery and chemotherapy (PEb) (stages II–IV)
| | Malignant testicular GCTs in postpubertal males | For information, see Testicular Cancer Treatment.
| Childhood malignant ovarian GCTs:
| | Dysgerminomas of the ovary | Surgery and observation (stage I)
| | Dysgerminomas of the ovary | Surgery and chemotherapy (PEb) (stages II–IV)
| | Malignant nongerminomatous ovarian GCTs (yolk sac and mixed GCTs) in prepubertal females | Surgery and observation for prepubertal females (stage I following strict surgical staging guidelines)^b^. For information about the treatment of ovarian mature teratoma, see the Childhood Malignant Ovarian GCTs section.
| | Malignant nongerminomatous ovarian GCTs (yolk sac and mixed GCTs) in prepubertal females | Surgery and chemotherapy (PEb) for prepubertal and postpubertal females (purported stage I and stages II–IV)
| | Malignant nongerminomatous ovarian GCTs (yolk sac and mixed GCTs) in postpubertal females | Surgery and chemotherapy (BEP) for prepubertal and postpubertal females (purported stage I and stages II–IV)^c^
| | Malignant nongerminomatous ovarian GCTs (yolk sac and mixed GCTs) that are initially unresectable | Biopsy followed by chemotherapy and surgery (initially unresectable ovarian GCT)
Malignant extragonadal extracranial GCTs in children:
| Malignant extragonadal extracranial GCTs in prepubertal children | | Surgery and chemotherapy (PEb or JEb) (stages I –IV)
| Malignant extragonadal extracranial GCTs in prepubertal children | | Biopsy followed by chemotherapy with or without surgery (stages III and IV)
| Malignant extragonadal extracranial GCTs in postpubertal children | | Surgery
| Malignant extragonadal extracranial GCTs in postpubertal children | | Chemotherapy (BEP)
| Malignant extragonadal extracranial GCTs in postpubertal children | | Chemotherapy followed by surgery to remove residual tumor
| Malignant extragonadal extracranial GCTs in postpubertal children | | Enrollment in a clinical trial
Recurrent malignant GCTs in children | | | Surgery alone
Recurrent malignant GCTs in children | | | Surgery with neoadjuvant or adjuvant chemotherapy

BEP = bleomycin (weekly), etoposide, and cisplatin; JEb = carboplatin, etoposide, and bleomycin; PEb = cisplatin, etoposide, and bleomycin (bleomycin only on day 1 of each cycle).

^a^Chemotherapy has not been shown to be effective in the treatment of children with stages II–IV immature teratoma. However, the role of chemotherapy in these patients has not been systematically studied. In postpubertal patients, chemotherapy remains the standard treatment, although studies are limited.[2]

^b^In prepubertal females with reported stage I disease, but in whom strict surgical staging guidelines were not followed, chemotherapy (PEb) can be considered standard treatment.[3]

^c^In postpubertal females with stage I disease, the strategy of observation after surgery has not been established. This treatment strategy is under investigation in a clinical trial (AGCT1531 [NCT03067181] (https://www.cancer.gov/clinicaltrials/NCT03067181)).

#### GCTs with non-GCT elements (teratoma with malignant transformation)

The treatment of GCTs with other non-GCT somatic elements is complex, and few data exist to direct treatment. In adolescents, central primitive neuroectodermal tumors and sarcomas have been found in teratomas.[4,5] The Italian Pediatric Germ Cell Tumor group identified 14 patients with malignant GCTs with a somatic malignancy, such as neuroblastoma or rhabdomyosarcoma, embedded in teratomas (<2% of extracranial GCTs).[6]

The optimal treatment strategy for GCTs with non-GCT elements has not been determined. Separate treatments for both malignant GCTs and non-GCT elements may be required.

### Surgery

Surgery is an essential component of treatment. Specific treatments will be discussed for each tumor type.

### Surgery and Observation

For patients with completely resected immature teratomas of all grades and at any location, and for patients with localized, completely resected (stage I) seminomatous and nonseminomatous GCTs (testicular and ovarian), additional therapy may not be necessary. However, close monitoring of patients is important.[7,8] The watch-and-wait approach requires scheduled serial physical examination, tumor marker determination, and primary tumor imaging to ensure that a recurrent tumor is detected without delay.

### Chemotherapy

In the United States, the standard chemotherapy regimen for both adults and children with malignant nonseminomatous GCTs includes cisplatin, etoposide, and bleomycin. Adult patients receive weekly bleomycin throughout treatment (bleomycin, etoposide, and cisplatin [BEP]).[9-12] U.S. pediatric trials included patients aged 15 years and younger with testicular GCTs and patients aged 21 years and younger with ovarian and extragonadal GCTs. Patients received bleomycin only on day 1 of each cycle (cisplatin, etoposide, and bleomycin [PEb]).[3,13] The combination of carboplatin, etoposide, and bleomycin (JEb) underwent clinical investigation in the United Kingdom in children younger than 16 years. Treatment with this regimen produced event-free survival (EFS) rates by site and stage similar to those produced using treatment with PEb.[14,15]; [16][Level of evidence C1] For information about adult BEP and pediatric PEb and JEb chemotherapy dosing schedules, see Table 8.[3,9-11,13] In both adult and pediatric trials, the number of adolescent subjects was small. The optimal therapy for adolescents (aged ≥11 years) is not clear.[17]

The use of JEb appears to be associated with fewer otologic toxic effects and renal toxic effects than does the use of PEb.[14] In a retrospective meta-analysis of data from the Children’s Oncology Group (COG) and the Children’s Cancer and Leukaemia Group germ cell studies conducted contemporaneously, the multivariate cure model showed no difference in 4-year EFS rates. The 4-year EFS rate was 86% (95% confidence interval [CI], 83%–89%) for patients who received the cisplatin regimen (n = 620) and 86% (95% CI, 79%–90%) for patients who received the carboplatin regimen (n = 163) (P = .87).[18][Level of evidence C1] However, PEb and JEb have not been compared in a randomized pediatric GCT trial.

Table 8. Comparison of Adult BEP and Pediatric PEb and JEb Chemotherapy Dosing Schedules

Regimen | Bleomycin | Etoposide | Cisplatin | Carboplatin
Adult BEP (every 21 days) [11,19] | 30 units/m^2^, days 1, 8, 15 (maximum 30 units) | 100 mg/m^2^, days 1–5 | 20 mg/m^2^, days 1–5
Pediatric PEb (every 21 days) [3,13] | 15 units/m^2^, day 1 (maximum 30 units) | 100 mg/m^2^, days 1–5 | 20 mg/m^2^, days 1–5
Pediatric JEb (every 21–28 days) [14] | 15 units/m^2^, day 3 (maximum 30 units) | 120 mg/m^2^, days 1–3 | | 600 mg/m^2^ or GFR-based dosing, day 2

BEP = bleomycin, etoposide, and cisplatin; GFR = glomerular filtration rate; JEb = carboplatin, etoposide, and bleomycin; PEb = cisplatin, etoposide, and bleomycin.

Several trials were conducted by the COG (previously the Children's Cancer Group and the Pediatric Oncology Group).[3,7,13] These trials explored the use of PEb for the treatment of localized gonadal GCT [3] and intensified regimens for patients with poor-risk features. The strategies included high-dose cisplatin (200 mg/m^2^) and cyclophosphamide or the protective agent amifostine.[13,20] None of these strategies had a significant effect on survival or decreased toxicity.

The COG conducted a trial of compressed and reduced PEb chemotherapy (three cycles in 3 days) for patients with low-risk or intermediate-risk malignant GCTs. This study was designed as a noninferior trial with a P value of .1. The 4-year EFS rate of 89% was significantly lower than the rate for the historical control model (92%; P = .08).[21] However, the number of patients in each stratum was small, and further investigation in patients with lower-stage disease may be warranted.

### Radiation Therapy

Testicular and mediastinal seminomas in males and ovarian dysgerminomas in females are sensitive to radiation, but radiation therapy is rarely recommended because of the known late effects.

### References

Rescorla FJ: Pediatric germ cell tumors. Semin Surg Oncol 16 (2): 144-58, 1999.9988869
Norris HJ, Zirkin HJ, Benson WL: Immature (malignant) teratoma of the ovary: a clinical and pathologic study of 58 cases. Cancer 37 (5): 2359-72, 1976.1260722 76163013
Rogers PC, Olson TA, Cullen JW, et al.: Treatment of children and adolescents with stage II testicular and stages I and II ovarian malignant germ cell tumors: A Pediatric Intergroup Study--Pediatric Oncology Group 9048 and Children's Cancer Group 8891. J Clin Oncol 22 (17): 3563-9, 2004.15337806
Ehrlich Y, Beck SD, Ulbright TM, et al.: Outcome analysis of patients with transformed teratoma to primitive neuroectodermal tumor. Ann Oncol 21 (9): 1846-50, 2010.20231305
Rice KR, Magers MJ, Beck SD, et al.: Management of germ cell tumors with somatic type malignancy: pathological features, prognostic factors and survival outcomes. J Urol 192 (5): 1403-9, 2014.24952240
Terenziani M, D'Angelo P, Bisogno G, et al.: Teratoma with a malignant somatic component in pediatric patients: the Associazione Italiana Ematologia Oncologia Pediatrica (AIEOP) experience. Pediatr Blood Cancer 54 (4): 532-7, 2010.20049928
Marina NM, Cushing B, Giller R, et al.: Complete surgical excision is effective treatment for children with immature teratomas with or without malignant elements: A Pediatric Oncology Group/Children's Cancer Group Intergroup Study. J Clin Oncol 17 (7): 2137-43, 1999.10561269 20029998
Schlatter M, Rescorla F, Giller R, et al.: Excellent outcome in patients with stage I germ cell tumors of the testes: a study of the Children's Cancer Group/Pediatric Oncology Group. J Pediatr Surg 38 (3): 319-24; discussion 319-24, 2003.12632342 22519191
de Wit R, Roberts JT, Wilkinson PM, et al.: Equivalence of three or four cycles of bleomycin, etoposide, and cisplatin chemotherapy and of a 3- or 5-day schedule in good-prognosis germ cell cancer: a randomized study of the European Organization for Research and Treatment of Cancer Genitourinary Tract Cancer Cooperative Group and the Medical Research Council. J Clin Oncol 19 (6): 1629-40, 2001.11250991 21150310
Gershenson DM, Morris M, Cangir A, et al.: Treatment of malignant germ cell tumors of the ovary with bleomycin, etoposide, and cisplatin. J Clin Oncol 8 (4): 715-20, 1990.1690272 90188473
Williams SD, Birch R, Einhorn LH, et al.: Treatment of disseminated germ-cell tumors with cisplatin, bleomycin, and either vinblastine or etoposide. N Engl J Med 316 (23): 1435-40, 1987.2437455 87201806
International Germ Cell Consensus Classification: a prognostic factor-based staging system for metastatic germ cell cancers. International Germ Cell Cancer Collaborative Group. J Clin Oncol 15 (2): 594-603, 1997.9053482 97178749
Cushing B, Giller R, Cullen JW, et al.: Randomized comparison of combination chemotherapy with etoposide, bleomycin, and either high-dose or standard-dose cisplatin in children and adolescents with high-risk malignant germ cell tumors: a pediatric intergroup study--Pediatric Oncology Group 9049 and Children's Cancer Group 8882. J Clin Oncol 22 (13): 2691-700, 2004.15226336
Mann JR, Raafat F, Robinson K, et al.: The United Kingdom Children's Cancer Study Group's second germ cell tumor study: carboplatin, etoposide, and bleomycin are effective treatment for children with malignant extracranial germ cell tumors, with acceptable toxicity. J Clin Oncol 18 (22): 3809-18, 2000.11078494 20530736
Stern JW, Bunin N: Prospective study of carboplatin-based chemotherapy for pediatric germ cell tumors. Med Pediatr Oncol 39 (3): 163-7, 2002.12210444 22199335
Depani S, Stoneham S, Krailo M, et al.: Results from the UK Children's Cancer and Leukaemia Group study of extracranial germ cell tumours in children and adolescents (GCIII). Eur J Cancer 118: 49-57, 2019.31306943
Frazier AL, Hale JP, Rodriguez-Galindo C, et al.: Revised risk classification for pediatric extracranial germ cell tumors based on 25 years of clinical trial data from the United Kingdom and United States. J Clin Oncol 33 (2): 195-201, 2015.25452439
Frazier AL, Stoneham S, Rodriguez-Galindo C, et al.: Comparison of carboplatin versus cisplatin in the treatment of paediatric extracranial malignant germ cell tumours: A report of the Malignant Germ Cell International Consortium. Eur J Cancer 98: 30-37, 2018.29859339
Einhorn LH, Williams SD, Loehrer PJ, et al.: Evaluation of optimal duration of chemotherapy in favorable-prognosis disseminated germ cell tumors: a Southeastern Cancer Study Group protocol. J Clin Oncol 7 (3): 387-91, 1989.2465391 89140928
Marina N, Chang KW, Malogolowkin M, et al.: Amifostine does not protect against the ototoxicity of high-dose cisplatin combined with etoposide and bleomycin in pediatric germ-cell tumors: a Children's Oncology Group study. Cancer 104 (4): 841-7, 2005.15999362
Shaikh F, Cullen JW, Olson TA, et al.: Reduced and Compressed Cisplatin-Based Chemotherapy in Children and Adolescents With Intermediate-Risk Extracranial Malignant Germ Cell Tumors: A Report From the Children's Oncology Group. J Clin Oncol 35 (11): 1203-1210, 2017.28240974

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Transplant surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.

## Treatment of Mature and Immature Teratomas in Children

Mature and immature teratomas arise primarily in the sacrococcygeal region of neonates and young children and in the ovaries of pubescent girls. Less commonly, these tumors are found in the testicular region of boys younger than 4 years, the mediastinum of adolescents, and other sites.[1-3] The primary treatment for teratomas is surgery with complete resection. Surgical options for sacrococcygeal teratomas are complex.

Benign head and neck teratomas and immature teratomas can cause morbidity and mortality through obstruction. In preterm infants and neonates, head and neck teratomas and immature teratomas can cause significant airway compromise. In a single-institutional report, airway obstruction was overcome by using the ex utero intrapartum treatment (EXIT) procedure.[4] Complete resection of a teratoma can be achieved.

### Treatment of Mature Teratomas

#### Standard treatment options for mature teratomas (sacrococcygeal sites)

The sacrococcygeal region is the primary tumor site for most benign and malignant germ cell tumors (GCTs) diagnosed in neonates, infants, and children younger than 4 years. These tumors occur more often in girls than in boys; ratios of 3:1 to 4:1 have been reported.[5]

Sacrococcygeal tumors present in the following two clinical patterns related to the child’s age, tumor location, and likelihood of tumor malignancy:[1]

- Neonates: Neonatal tumors present at birth protruding from the sacral site. However, saccrococcygeal tumors may extend into the retroperitoneal space without outward protrusion. They are usually mature or immature teratomas.
- Infants and young children: In infants and young children, tumors present as a palpable mass in the sacro-pelvic region, compressing the bladder or rectum. These pelvic tumors are more likely to be malignant.
  The older the child at presentation, the more likely a malignant component is present in addition to the teratoma. An early survey found that the rate of tumor malignancy was 48% for girls and 67% for boys older than 2 months at the time of sacrococcygeal tumor diagnosis, compared with a malignant tumor incidence of 7% for girls and 10% for boys younger than 2 months at the time of diagnosis.[6] The pelvic primary tumor site has been reported to be an adverse prognostic factor. This could be due to a delayed diagnosis because it was overlooked at birth or incomplete resection at the time of original surgery.[6-9]

Standard treatment options for mature teratomas in a sacrococcygeal site include the following:

1. Surgery and observation.

Surgery is an essential component of treatment. Complete resection of the coccyx is vital to minimize the likelihood of tumor recurrence.[2]

#### Standard treatment options for mature teratomas (nonsacrococcygeal sites)

Standard treatment options for mature teratomas in a nonsacrococcygeal site include the following:

1. Surgery and observation.

Children with mature teratomas, including mature teratomas of the mediastinum, can be treated with surgery and observation and have an excellent prognosis.[1,10]

In a review of 153 children with nontesticular mature teratomas, the 6-year relapse-free survival rate was 96% for patients with completely resected disease and 55% for patients with incompletely resected disease.[2] Another series included 57 girls with mature teratomas of the ovary. Two patients experienced tumor recurrences (8 and 12 months after ovarian-sparing surgery), and seven patients developed metachronous tumors (as late as 79 months after initial diagnosis).[11][Level of evidence C1]

A multidisciplinary team should treat and monitor neonates with head and neck GCTs. Although most head and neck GCTs are benign, they can be life-threatening and present significant challenges to surgeons, especially in newborns.[4] Some tumors develop malignant elements, which may change the treatment strategy.[12,13]

Mature teratomas in the prepubertal testis are relatively common benign lesions and may be amenable to testis-sparing surgery.[14]

### Treatment of Immature Teratomas

#### Treatment options for immature teratomas

Treatment options for immature teratomas include the following:

1. Surgery and observation (stage I).
2. Surgery and observation or chemotherapy (stages I–IV). The use of chemotherapy is controversial. For more information, see evidence on the role of chemotherapy for immature teratomas.

##### Surgery and observation (stage I)

Immature teratomas in children are primarily managed with surgery and observation.

Evidence (surgery and observation for stage I disease):

1. A surgery-alone approach was investigated in a study by the Pediatric Oncology Group and Children's Cancer Group. Surgical resection followed by careful observation was used to treat patients with immature teratomas.[15]
  - Surgery alone was curative for most children and adolescents with resected ovarian immature teratomas of any grade, even when elevated levels of serum alpha-fetoprotein (AFP) or microscopic foci of yolk sac tumor were present.
  - The 3-year event-free survival (EFS) rates were 97.8% for patients with ovarian tumors, 100% for patients with testicular tumors, and 80% for patients with extragonadal tumors.

##### Surgery and observation or chemotherapy (stages I–IV)

The use of chemotherapy is controversial in the treatment of immature teratomas. There are no clinical trials supporting the use of chemotherapy in children. In adult women with ovarian tumors, surgery followed by chemotherapy has been the standard treatment approach since 1976.[16] As in children, there are no clinical trials supporting the use of chemotherapy in adults.

Evidence (role of chemotherapy for immature teratomas):

1. A seminal article published in 1976 reported that most women with ovarian immature teratomas were treated with surgery and chemotherapy. This approach has remained standard practice in postpubertal females.[16]
2. A report on pediatric patients aged 15 years and younger in the United Kingdom found that immature teratomas did not respond to chemotherapy.[17]
3. A report from the Malignant Germ Cell Tumor International Collaborative (MaGIC) analyzed data from 98 pediatric patients and 81 adult patients with ovarian immature teratomas. Ninety pediatric patients underwent surgery alone. All 81 adult patients received adjuvant chemotherapy.[18][Level of evidence C1]
  - The 5-year EFS rate was 91% for pediatric patients and 98% for adult patients.
  - The overall survival (OS) rate was 83% for pediatric patients and 93% for adult patients.
  - There were no relapses in patients with grade I tumors. One adult patient with a grade II tumor relapsed after chemotherapy.
  - For pediatric patients with grade III, stage I/II tumors, the 5-year EFS rate was 92%. For patients with grade III, stage III tumors, the 5-year EFS rate was 52%.
  - For adult patients with grade III, stage I/II tumors, the 5-year EFS rate was 91%. For patients with grade III, stage III/IV tumors, the 5-year EFS rate was 65%.

Additional studies on the treatment of ovarian immature teratomas with chemotherapy are needed. For more information about the treatment of ovarian immature teratomas in postpubertal females, see Ovarian Germ Cell Tumors Treatment.

##### Treatment options under clinical evaluation for immature teratomas

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

1. AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) (Active Surveillance, Bleomycin, Carboplatin, Etoposide, or Cisplatin in Treating Pediatric and Adult Patients with GCTs): Patients with ovarian pure-cell immature teratomas that are Children's Oncology Group stage I (International Federation of Gynecology and Obstetrics [FIGO] stage IA and IB), grade 2 or 3, and have an AFP level of less than 1,000 ng/mL are eligible for surgery and observation on this trial.

### Follow-up After Treatment of Mature and Immature Teratomas

After successful resection, neonates diagnosed with benign mature and immature teratomas are closely observed with follow-up exams and serial serum AFP determinations. These tests are done for several years to ensure that AFP measurements normalize to expected physiological levels and to facilitate early detection of tumor relapse.[19,20] Several oncology groups have reported significant rates of recurrence among these benign tumors, ranging from 10% to 21%. Most relapses occur within 3 years of resection.[5,19,21,22]

While there is no standard follow-up schedule, tumor markers are measured frequently for 3 years in all children. With early detection, recurrent malignant GCTs can be treated successfully with surgery and chemotherapy (OS rate, 92%).[23] Long-term survivors are monitored for complications of extensive surgery, which include constipation, fecal and urinary incontinence, and psychologically unacceptable cosmetic scars.[24]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Rescorla FJ: Pediatric germ cell tumors. Semin Surg Oncol 16 (2): 144-58, 1999.9988869
Göbel U, Calaminus G, Engert J, et al.: Teratomas in infancy and childhood. Med Pediatr Oncol 31 (1): 8-15, 1998.9607423 98268439
Pinkerton CR: Malignant germ cell tumours in childhood. Eur J Cancer 33 (6): 895-901; discussion 901-2, 1997.9291812 97437279
Dharmarajan H, Rouillard-Bazinet N, Chandy BM: Mature and immature pediatric head and neck teratomas: A 15-year review at a large tertiary center. Int J Pediatr Otorhinolaryngol 105: 43-47, 2018.29447817
Rescorla FJ, Sawin RS, Coran AG, et al.: Long-term outcome for infants and children with sacrococcygeal teratoma: a report from the Childrens Cancer Group. J Pediatr Surg 33 (2): 171-6, 1998.9498381
Altman RP, Randolph JG, Lilly JR: Sacrococcygeal teratoma: American Academy of Pediatrics Surgical Section Survey-1973. J Pediatr Surg 9 (3): 389-98, 1974.4843993
Ablin AR, Krailo MD, Ramsay NK, et al.: Results of treatment of malignant germ cell tumors in 93 children: a report from the Childrens Cancer Study Group. J Clin Oncol 9 (10): 1782-92, 1991.1717667 92014151
Marina N, Fontanesi J, Kun L, et al.: Treatment of childhood germ cell tumors. Review of the St. Jude experience from 1979 to 1988. Cancer 70 (10): 2568-75, 1992.1384951 93046025
Baranzelli MC, Kramar A, Bouffet E, et al.: Prognostic factors in children with localized malignant nonseminomatous germ cell tumors. J Clin Oncol 17 (4): 1212, 1999.10561181 20029910
Schneider DT, Calaminus G, Reinhard H, et al.: Primary mediastinal germ cell tumors in children and adolescents: results of the German cooperative protocols MAKEI 83/86, 89, and 96. J Clin Oncol 18 (4): 832-9, 2000.10673525 20139488
Braungart S, Craigie RJ, Farrelly P, et al.: Ovarian tumors in children: how common are lesion recurrence and metachronous disease? A UK CCLG Surgeons Cancer Group nationwide study. J Pediatr Surg 55 (10): 2026-2029, 2020.31837839
Bernbeck B, Schneider DT, Bernbeck B, et al.: Germ cell tumors of the head and neck: report from the MAKEI Study Group. Pediatr Blood Cancer 52 (2): 223-6, 2009.18937314
Alexander VR, Manjaly JG, Pepper CM, et al.: Head and neck teratomas in children--A series of 23 cases at Great Ormond Street Hospital. Int J Pediatr Otorhinolaryngol 79 (12): 2008-14, 2015.26611341
Metcalfe PD, Farivar-Mohseni H, Farhat W, et al.: Pediatric testicular tumors: contemporary incidence and efficacy of testicular preserving surgery. J Urol 170 (6 Pt 1): 2412-5; discussion 2415-6, 2003.14634440
Marina NM, Cushing B, Giller R, et al.: Complete surgical excision is effective treatment for children with immature teratomas with or without malignant elements: A Pediatric Oncology Group/Children's Cancer Group Intergroup Study. J Clin Oncol 17 (7): 2137-43, 1999.10561269 20029998
Norris HJ, Zirkin HJ, Benson WL: Immature (malignant) teratoma of the ovary: a clinical and pathologic study of 58 cases. Cancer 37 (5): 2359-72, 1976.1260722 76163013
Mann JR, Gray ES, Thornton C, et al.: Mature and immature extracranial teratomas in children: the UK Children's Cancer Study Group Experience. J Clin Oncol 26 (21): 3590-7, 2008.18541896
Pashankar F, Hale JP, Dang H, et al.: Is adjuvant chemotherapy indicated in ovarian immature teratomas? A combined data analysis from the Malignant Germ Cell Tumor International Collaborative. Cancer 122 (2): 230-7, 2016.26485622
Huddart SN, Mann JR, Robinson K, et al.: Sacrococcygeal teratomas: the UK Children's Cancer Study Group's experience. I. Neonatal. Pediatr Surg Int 19 (1-2): 47-51, 2003.12721723
Egler RA, Gosiengfiao Y, Russell H, et al.: Is surgical resection and observation sufficient for stage I and II sacrococcygeal germ cell tumors? A case series and review. Pediatr Blood Cancer 64 (5): , 2017.27786428
Gonzalez-Crussi F, Winkler RF, Mirkin DL: Sacrococcygeal teratomas in infants and children: relationship of histology and prognosis in 40 cases. Arch Pathol Lab Med 102 (8): 420-5, 1978.580884 78209932
Gabra HO, Jesudason EC, McDowell HP, et al.: Sacrococcygeal teratoma--a 25-year experience in a UK regional center. J Pediatr Surg 41 (9): 1513-6, 2006.16952583
De Corti F, Sarnacki S, Patte C, et al.: Prognosis of malignant sacrococcygeal germ cell tumours according to their natural history and surgical management. Surg Oncol 21 (2): e31-7, 2012.22459912
Derikx JP, De Backer A, van de Schoot L, et al.: Long-term functional sequelae of sacrococcygeal teratoma: a national study in The Netherlands. J Pediatr Surg 42 (6): 1122-6, 2007.17560233

## Treatment of Malignant Gonadal GCTs in Children

### Childhood Malignant Testicular GCTs

#### Malignant testicular GCTs in prepubertal males

The role of surgery at diagnosis for germ cell tumors (GCTs) depends on patient age and tumor site, and treatment must be individualized. All malignant testicular GCTs should be resected. Resection may be followed by subsequent excision of residual masses after chemotherapy.

Testicular GCTs in children occur almost exclusively in boys younger than 5 years.[1,2] The initial surgical approach to evaluate a testicular mass in a young boy is important because a trans-scrotal biopsy can risk inguinal node metastasis.[3,4] Radical inguinal orchiectomy with initial high ligation of the spermatic cord is the procedure of choice.[5]

Computed tomography or magnetic resonance imaging evaluation, with the additional information provided by elevated tumor markers, appears adequate for staging. Retroperitoneal dissection of lymph nodes is not beneficial in the staging of testicular GCTs in young boys.[3,4] Therefore, there may be no reason to risk the potential morbidity (e.g., impotence and retrograde ejaculation) associated with lymph node dissection.[6,7]

A revised risk stratification was developed by the Malignant Germ Cell Tumor International Consortium (see Figure 4).[8]

##### Standard treatment options for malignant GCTs in prepubertal males

Standard treatment options for malignant GCTs in prepubertal males (aged <11 years) include the following:

1. Surgery and observation (stage I).
2. Surgery and chemotherapy (stages II–IV).

The treatment options for malignant GCTs in prepubertal males differ by stage of disease.

###### Surgery and observation (stage I)

Surgery and close follow-up observation are indicated to document that tumor marker levels normalize after resection.[3,9]

Evidence (surgery and observation for stage I disease in prepubertal males):

1. A Children’s Cancer Group (CCG)/Pediatric Oncology Group (POG) clinical trial evaluated surgery followed by observation for boys aged 10 years or younger with stage I testicular tumors.[3,4]
  - This treatment strategy resulted in a 6-year event-free survival (EFS) rate of 82%.
  - Boys who developed recurrent disease received salvage therapy with four cycles of standard-dose cisplatin, etoposide, and bleomycin (PEb), with a 6-year survival rate of 100%.
2. A subsequent Children’s Oncology Group (COG) study of 80 boys younger than 15 years with stage I disease included 15 boys aged 11 to 15 years who were treated with surgery and observation.[10][Level of evidence C1]
  - The 4-year EFS rate was 80% for the 65 boys younger than 11 years at diagnosis and 48% for the 15 boys aged 11 years and older (P < .01). All patients' disease was eventually salvaged, with a 4-year overall survival (OS) rate of 100%.
  - Favorable prognostic factors were younger age, presence of pure yolk sac tumor, and lack of lymphovascular invasion by the primary tumor.
  - Adult testicular staging systems classify patients with lymphovascular invasion as stage IB. In the entire cohort, those with lymphovascular invasion had a lower 4-year EFS rate (62% vs. 84%).
3. A pooled analysis (from the studies above) provided more complete outcome data on patients with stage I disease who were treated with surgery and observation.[11][Level of evidence C2]
  - Most patients were prepubertal, but 13.2% of patients were adolescents (aged 13–15 years).
  - At a median follow-up of 56 months, all patients were alive.
  - There were 25 events.
  - On multivariate analysis, independent prognostic factors were age younger than 12 years (hazard ratio [HR], 8.87; P < .0001) and higher pT stage (pT2: HR, 7.31; P = .0017 and pT3: HR, 13.5; P = .0047).
4. A German study (MAHO 98) of 128 boys younger than 10 years with testicular GCTs, mostly stage I, also evaluated surgery followed by observation.[12][Level of evidence C1]
  - There were 49 patients with yolk sac tumors that were staged as IA after inguinal orchiectomy. Stage IA includes no evidence of lymphovascular invasion. The 5-year EFS rate was 95%, and the 5-year OS rate was 100% for this group. Two patients relapsed and then were cured after chemotherapy.
  - There were 12 patients who initially had trans-scrotal orchiectomy who were pathologically confirmed to have no lymphovascular invasion (would be considered stage IA, if not for surgery). Ten patients were observed who had no adverse events. Two patients relapsed (17%) and remained in continuous remission after chemotherapy. No patients had hemiscrotectomy. A long-standing question has been whether trans-scrotal orchiectomy necessitates chemotherapy or hemiscrotectomy.

###### Surgery and chemotherapy (stages II–IV)

Surgery and chemotherapy with four cycles of standard PEb is a common treatment regimen for prepubertal males with stages II through IV disease. Patients treated with this regimen have OS rates exceeding 90%, suggesting that a reduction in therapy could be considered.[13,14]

Surgery and treatment with four to six cycles of carboplatin, etoposide, and bleomycin (JEb) is an alternative treatment regimen.[9]

Evidence (surgery and chemotherapy for stages II–IV disease in prepubertal males):

1. A CCG/POG clinical trial evaluated boys younger than 10 years with stage II tumors who were treated with four cycles of PEb after diagnosis.[13]
  - The 6-year EFS and OS rates were 100%.
2. In the same CCG/POG clinical trial, boys and adolescents (aged 14 years and younger) with stage III and stage IV testicular tumors were treated with surgical resection followed by four cycles of standard-dose PEb or high-dose PEb (HD-PEb) therapy.[14]
  - The 6-year survival rate for males younger than 15 years with stage III and stage IV tumors was 100%.
  - The 6-year EFS rate for males younger than 15 years was 100% for stage III tumors and 94% for stage IV tumors.
  - The use of HD-PEb therapy did not improve the outcome for these boys but did cause increased incidence of otologic toxic effects.
3. European investigators have reported excellent outcomes for boys with testicular GCTs using surgery and observation for stage I tumors and JEb and other cisplatin-containing chemotherapy regimens for stage II, stage III, and stage IV tumors.[6,9]
4. A phase III, single-arm COG trial (AGCT0132 (https://www.cancer.gov/clinicaltrials/NCT00053352) [NCT00053352]) included 210 intermediate-risk patients (stages II–IV testicular, stages II–III ovarian, stages I–II extragonadal, or stage I gonadal tumors with subsequent recurrence). These patients received three, rather than four, cycles of PEb and the schedule was compressed from 5 days to 3 days per cycle. A parametric comparator model specified that the observed EFS rate would not be significantly less than 92%.[15][Level of evidence B4]
  - The 4-year EFS rate was 89% (95% confidence interval, 83%–92%), which was significantly lower than the 92% threshold of the comparison model (P = .08).
  - In a post hoc analysis, the EFS rate was compared with similar patients treated with four cycles of PEb in two previous studies. Among 181 newly diagnosed patients, the 4-year EFS rate was 87%, compared with 92% for 92 comparable children in the historical cohort (P = .15).
  - The 4-year EFS rate was significantly associated with stage (stage I, 100%; stage II, 92%; stage III, 85%; and stage IV, 54%; P < .001).
  - These data do not support a reduction in the number of cycles of PEb from four to three.

#### Malignant testicular GCTs in postpubertal males

The treatment options described for prepubertal males may not be strictly applicable to postpubertal males. In particular, retroperitoneal lymph node dissection is a treatment option and may play a crucial role [16] in the initial treatment of patients or in subsequent treatment of patients with residual disease after chemotherapy for metastatic testicular GCT.[17,18] A meta-analysis showed that patients older than 11 years were at higher risk of recurrence.[8] The number of males aged 11 to 15 years with GCT is small; it is possible that these patients should be treated according to adult standards. For more information about the treatment of malignant testicular GCTs in postpubertal males, see Testicular Cancer Treatment.

##### Standard treatment options for malignant testicular GCTs in postpubertal males

For information about the treatment of malignant testicular GCTs in postpubertal males, see Testicular Cancer Treatment.

##### Treatment options under clinical evaluation for malignant testicular GCTs

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

1. AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) (Active Surveillance, Bleomycin, Carboplatin, Etoposide, or Cisplatin in Treating Pediatric and Adult Patients with GCTs): The aim of this trial is to reduce toxicity and maintain efficacy of treatment for patients with standard-risk GCTs. Patients with stage I malignant GCTs (low risk, age 0–50 years) will be treated with surgery and observation. Patients with intermediate-risk GCTs will be randomly assigned to receive cisplatin or carboplatin and bleomycin and etoposide. Children younger than 11 years will receive bleomycin with each cycle, and those aged 11 years and older will receive weekly bleomycin. Patients with pure seminoma or dysgerminoma are excluded from the trial.

###### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Childhood Malignant Ovarian GCTs

Most ovarian neoplasms in children and adolescents are of germ cell origin.[19] Ovarian GCTs are very rare in young girls, but the incidence begins to increase in children aged approximately 8 or 9 years and continues to rise throughout adulthood.[1]

Childhood malignant ovarian GCTs can be divided into germinomatous (dysgerminomas) and nongerminomatous malignant GCTs (i.e., yolk sac carcinomas, mixed GCTs, choriocarcinoma, and embryonal carcinomas).

For more information about childhood mature and immature teratomas arising in the ovary, see the Treatment of Mature Teratomas section. For more information about the treatment of ovarian GCT in postpubertal females, see Ovarian Germ Cell Tumors Treatment.

#### Dysgerminomas of the ovary

##### Standard treatment options for dysgerminomas of the ovary

Standard treatment options for dysgerminomas of the ovary include the following:

1. Surgery and observation (stage I).
2. Surgery and chemotherapy (stages II–IV).

The treatment options for dysgerminomas of the ovary differ by stage of disease.

###### Surgery and observation (stage I)

For stage I ovarian dysgerminomas, a cure can usually be achieved by unilateral salpingo-oophorectomy, conserving the uterus and opposite ovary, and close follow-up observation.[9,20-23]

Evidence (surgery and observation for stage I dysgerminomas):

1. In three successive French Society of Pediatric Oncology studies (TGM-85, TGM-90, and TGM-95), the following was reported:[24][Level of evidence C1]
  - Fifteen patients were identified as stage I, and all patients survived.
  - Before 1998, eight patients were treated with adjuvant radiation or chemotherapy. After a practice change in 1998, seven patients underwent surgery and observation.
  - One of the seven patients (14%) had a tumor event and responded to treatment with chemotherapy.

###### Surgery and chemotherapy (stages II–IV)

While advanced-stage ovarian dysgerminomas, like testicular seminomas, are highly curable with surgery and radiation therapy, the effects on growth, fertility, and risk of treatment-induced second malignancy in these young patients [25 ,26] make chemotherapy a more attractive adjunct to surgery.[27,28] Complete tumor resection is the goal for advanced dysgerminomas. Platinum-based chemotherapy can be given preoperatively to facilitate resection or postoperatively (after debulking surgery) to avoid mutilating surgical procedures.[23]

Evidence (surgery and chemotherapy for stage II–IV dysgerminomas):

1. In a report from the French Society of Pediatric Oncology, 48 girls younger than 19 years (median age, 12.8 years) were registered; 20 patients had localized disease, 28 patients had locoregional disease, and no patients had metastases. Seven patients had positive para-aortic lymph nodes. Forty-seven patients underwent primary surgery. Before 1998, all patients with advanced disease received radiation therapy. After a practice change in 1998, patients were treated with platinum-based chemotherapy.[24][Level of evidence C1]
  - The 5-year EFS rate was 91%, and the 5-year OS rate was 100%.
  - Side effects were not severe, and several patients became pregnant in later years.
2. A meta-analysis of patients with dysgerminoma by the Malignant Germ Cell Tumor International Consortium reported the following:[29]
  - No difference was seen between patients who were treated with cisplatin (n = 70) (5-year EFS rate, 93%; OS rate, 96%) and patients who were treated with carboplatin (n = 56) (5-year EFS rate, 96%; OS rate, 96%).

This approach results in a high rate of cure and the preservation of menstrual function and fertility in most patients with dysgerminomas.[27,30]

#### Malignant nongerminomatous ovarian GCTs

A multidisciplinary approach is essential for treatment of ovarian GCTs. Various surgical subspecialists and the pediatric oncologist must be involved in clinical decisions. The surgical approach for pediatric ovarian GCTs is often guided by the expectation that reproductive function can be preserved.

The treatment of ovarian malignant GCTs that are not dysgerminomas or immature teratomas generally involves surgical resection and adjuvant chemotherapy.[31,32]

The role for surgery at diagnosis depends on patient age and tumor site, and treatment must be individualized. The use of laparoscopy in children with ovarian GCTs has not been well studied.

The use of intraoperative frozen biopsy in pediatric and adolescent patients to determine the presence of malignancy to allow an ovarian-sparing procedure has been questioned. In a retrospective analysis from the COG AGCT0132 (NCT00053352) (https://www.cancer.gov/clinicaltrials/NCT00053352) study, 60 of 131 eligible patients with ovarian tumors had both intraoperative frozen section and final paraffin section diagnoses available.[33] Intraoperative frozen section biopsy was incorrect 38% of the time (23 patients), and it confirmed the final diagnosis 76% of the time. In addition, central pathological review detected additional germ cell components in 23.7% of patients.

Pediatric surgical guidelines to determine stage I disease have been published.[34] Adult surgical guidelines to determine stage are more extensive. For more information about staging of ovarian GCTs in postpubertal females, see the Stage Information for Ovarian Germ Cell Tumors section in Ovarian Germ Cell Tumors Treatment.

Strict surgical staging guidelines need to be followed to determine true stage I disease. Historically, in both pediatric and adult studies, comprehensive staging guidelines have not been followed. If strict surgical staging guidelines are not followed, surgery followed by chemotherapy, rather than surgery followed by observation, is the standard treatment.[9,13,35]

A goal of surgical therapy for pediatric GCTs is to preserve reproductive function. If conservative surgery is the choice, a high rate of cure can be obtained with adjuvant chemotherapy, and adherence to strict surgical guidelines is not necessary.[36]

##### Standard treatment options for malignant nongerminomatous ovarian GCTs

Standard treatment options for malignant nongerminomatous ovarian GCTs in prepubertal females include the following:

1. Surgery and observation (stage I following strict surgical staging guidelines).
2. Surgery and chemotherapy (PEb) (purported stage I and stages II–IV).

Standard treatment options for malignant nongerminomatous ovarian GCTs in postpubertal females include the following:

1. Surgery and chemotherapy (bleomycin, etoposide, and cisplatin [BEP]) (purported stage I and stages II–IV).

Standard treatment options for malignant nongerminomatous ovarian GCTs that cannot be resected initially include the following:

1. Biopsy followed by chemotherapy and surgery (initially unresectable tumor).

###### Surgery and observation for prepubertal females (stage I following strict surgical staging guidelines)

When strict surgical staging guidelines are followed, surgery followed by observation may be an appropriate treatment choice for prepubertal females with stage I disease.

Evidence (surgery and observation for prepubertal females with stage I disease):

1. In a COG trial, 25 girls with stage I ovarian malignant GCTs were treated with surgery and observation.[34]
  - The 4-year EFS rate was 52%.
  - Relapse was detected in 12 patients by tumor marker elevation (mean time, 2 months). All patients later received salvage therapy with three cycles of PEb. The 4-year OS rate was 96%; one patient's disease was not salvaged.
2. Similar results have been reported in other international pediatric trials, but the number of patients has been small.[9]

###### Surgery and chemotherapy for prepubertal and postpubertal females (purported stage I and stages II–IV)

A revised risk stratification was developed by the Malignant Germ Cell Tumor International Consortium (see Figure 4).[8]

Chemotherapy regimens with cisplatin (PEb) or carboplatin (JEb) have been used successfully in children.[9,13,14,20] BEP is a common regimen in young women with ovarian GCTs.[37,38] BEP differs from PEb with the addition of weekly bleomycin. This approach results in a high rate of cure and the preservation of menstrual function and fertility in most patients with nondysgerminomas.[32,35] For more information about the dosing schedules for BEP, PEb, and JEb, see Table 8.

In prepubertal females with purported stage I ovarian tumors (when strict surgical staging guidelines are not followed) surgery followed by chemotherapy (four cycles of PEb) is an appropriate treatment choice and results in EFS and OS rates of 95%.[13,14]

In postpubertal females with purported stage I ovarian tumors, chemotherapy after resection remains the standard treatment. In postpubertal females, the strategy of observation after surgery has not been established and is under investigation in the AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) trial.

In prepubertal and postpubertal females with stages II, III, or IV ovarian tumors, surgery and chemotherapy are considered standard treatments. Surgery and chemotherapy with four to six cycles of standard PEb is used to treat younger (prepubertal) girls,[13,14] and BEP is used to treat postpubertal girls.[37,38] Patients with normalization of tumor markers undergo imaging after four cycles of PEb, and any residual tumor is resected. Patients with residual viable tumor after surgery are considered refractory.

Alternatively, surgery and chemotherapy with four to six cycles of JEb is a treatment option (as demonstrated in one study in which all patients were younger than 15 years).[9]

###### Initially unresectable ovarian GCT

Primary resection of ovarian GCT is usually attempted. However, in rare instances, primary resection of the ovary is not possible without undue risk of damage to adjacent structures. In these cases, an appropriate strategy is biopsy for diagnosis, followed by chemotherapy and then subsequent surgery for patients who have residual masses after undergoing chemotherapy.

#### Treatment options under clinical evaluation for malignant ovarian GCTs

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

1. AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) (Active Surveillance, Bleomycin, Carboplatin, Etoposide, or Cisplatin in Treating Pediatric and Adult Patients with GCTs): The aim of this trial is to reduce toxicity and maintain efficacy of treatment for patients with standard-risk GCTs. Patients with stage I malignant GCTs (low risk, age 0–50 years) will be treated with surgery and observation. Patients with intermediate-risk GCTs will be randomly assigned to receive cisplatin or carboplatin and bleomycin and etoposide. Children younger than 11 years will receive bleomycin with each cycle, and those aged 11 years and older will receive weekly bleomycin. Patients with pure seminoma or dysgerminoma are excluded from the trial.

##### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Walsh TJ, Grady RW, Porter MP, et al.: Incidence of testicular germ cell cancers in U.S. children: SEER program experience 1973 to 2000. Urology 68 (2): 402-5; discussion 405, 2006.16904461
Schlatter M, Rescorla F, Giller R, et al.: Excellent outcome in patients with stage I germ cell tumors of the testes: a study of the Children's Cancer Group/Pediatric Oncology Group. J Pediatr Surg 38 (3): 319-24; discussion 319-24, 2003.12632342 22519191
Canning DA: Excellent outcome in patients with stage I germ cell tumors of the testes: a study of the Children's Cancer Group/Pediatric Oncology Group [Editorial Comment on Schlatter]. J Urol 174 (1): 310, 2005.
Rescorla FJ: Pediatric germ cell tumors. Semin Surg Oncol 16 (2): 144-58, 1999.9988869
Haas RJ, Schmidt P, Göbel U, et al.: Treatment of malignant testicular tumors in childhood: results of the German National Study 1982-1992. Med Pediatr Oncol 23 (5): 400-5, 1994.7521931 94366361
Pinkerton CR: Malignant germ cell tumours in childhood. Eur J Cancer 33 (6): 895-901; discussion 901-2, 1997.9291812 97437279
Frazier AL, Hale JP, Rodriguez-Galindo C, et al.: Revised risk classification for pediatric extracranial germ cell tumors based on 25 years of clinical trial data from the United Kingdom and United States. J Clin Oncol 33 (2): 195-201, 2015.25452439
Mann JR, Raafat F, Robinson K, et al.: The United Kingdom Children's Cancer Study Group's second germ cell tumor study: carboplatin, etoposide, and bleomycin are effective treatment for children with malignant extracranial germ cell tumors, with acceptable toxicity. J Clin Oncol 18 (22): 3809-18, 2000.11078494 20530736
Rescorla FJ, Ross JH, Billmire DF, et al.: Surveillance after initial surgery for Stage I pediatric and adolescent boys with malignant testicular germ cell tumors: Report from the Children's Oncology Group. J Pediatr Surg 50 (6): 1000-3, 2015.25812445
Singla N, Wong J, Singla S, et al.: Clinicopathologic predictors of outcomes in children with stage I testicular germ cell tumors: A pooled post hoc analysis of trials from the Children's Oncology Group. J Pediatr Urol 18 (4): 505-511, 2022.35606324
Göbel U, Haas R, Calaminus G, et al.: Testicular germ cell tumors in boys <10 years: results of the protocol MAHO 98 in respect to surgery and watch & wait strategy. Klin Padiatr 225 (6): 296-302, 2013.24158884
Rogers PC, Olson TA, Cullen JW, et al.: Treatment of children and adolescents with stage II testicular and stages I and II ovarian malignant germ cell tumors: A Pediatric Intergroup Study--Pediatric Oncology Group 9048 and Children's Cancer Group 8891. J Clin Oncol 22 (17): 3563-9, 2004.15337806
Cushing B, Giller R, Cullen JW, et al.: Randomized comparison of combination chemotherapy with etoposide, bleomycin, and either high-dose or standard-dose cisplatin in children and adolescents with high-risk malignant germ cell tumors: a pediatric intergroup study--Pediatric Oncology Group 9049 and Children's Cancer Group 8882. J Clin Oncol 22 (13): 2691-700, 2004.15226336
Shaikh F, Cullen JW, Olson TA, et al.: Reduced and Compressed Cisplatin-Based Chemotherapy in Children and Adolescents With Intermediate-Risk Extracranial Malignant Germ Cell Tumors: A Report From the Children's Oncology Group. J Clin Oncol 35 (11): 1203-1210, 2017.28240974
de Wit R, Fizazi K: Controversies in the management of clinical stage I testis cancer. J Clin Oncol 24 (35): 5482-92, 2006.17158533
Carver BS, Shayegan B, Serio A, et al.: Long-term clinical outcome after postchemotherapy retroperitoneal lymph node dissection in men with residual teratoma. J Clin Oncol 25 (9): 1033-7, 2007.17261854
Carver BS, Shayegan B, Eggener S, et al.: Incidence of metastatic nonseminomatous germ cell tumor outside the boundaries of a modified postchemotherapy retroperitoneal lymph node dissection. J Clin Oncol 25 (28): 4365-9, 2007.17906201
Ries LA, Smith MA, Gurney JG, et al., eds.: Cancer incidence and survival among children and adolescents: United States SEER Program 1975-1995. National Cancer Institute, SEER Program, 1999. NIH Pub.No. 99-4649. Also available online (https://seer.cancer.gov/archive/publications/childhood/). Last accessed December 22, 2023.
Baranzelli MC, Bouffet E, Quintana E, et al.: Non-seminomatous ovarian germ cell tumours in children. Eur J Cancer 36 (3): 376-83, 2000.10708940
Dark GG, Bower M, Newlands ES, et al.: Surveillance policy for stage I ovarian germ cell tumors. J Clin Oncol 15 (2): 620-4, 1997.9053485 97178752
Marina NM, Cushing B, Giller R, et al.: Complete surgical excision is effective treatment for children with immature teratomas with or without malignant elements: A Pediatric Oncology Group/Children's Cancer Group Intergroup Study. J Clin Oncol 17 (7): 2137-43, 1999.10561269 20029998
Gershenson DM: Chemotherapy of ovarian germ cell tumors and sex cord stromal tumors. Semin Surg Oncol 10 (4): 290-8, 1994 Jul-Aug.8091071 94377822
Duhil de Bénazé G, Pacquement H, Faure-Conter C, et al.: Paediatric dysgerminoma: Results of three consecutive French germ cell tumours clinical studies (TGM-85/90/95) with late effects study. Eur J Cancer 91: 30-37, 2018.29331749
Teinturier C, Gelez J, Flamant F, et al.: Pure dysgerminoma of the ovary in childhood: treatment results and sequelae. Med Pediatr Oncol 23 (1): 1-7, 1994.8177140 94232077
Mitchell MF, Gershenson DM, Soeters RP, et al.: The long-term effects of radiation therapy on patients with ovarian dysgerminoma. Cancer 67 (4): 1084-90, 1991.1991256 91121372
Brewer M, Gershenson DM, Herzog CE, et al.: Outcome and reproductive function after chemotherapy for ovarian dysgerminoma. J Clin Oncol 17 (9): 2670-75, 1999.10561340 20030069
Williams SD, Blessing JA, Hatch KD, et al.: Chemotherapy of advanced dysgerminoma: trials of the Gynecologic Oncology Group. J Clin Oncol 9 (11): 1950-5, 1991.1719142 92044708
Shah R, Xia C, Krailo M, et al.: Is carboplatin-based chemotherapy as effective as cisplatin-based chemotherapy in the treatment of advanced-stage dysgerminoma in children, adolescents and young adults? Gynecol Oncol 150 (2): 253-260, 2018.29884437
Gershenson DM: Menstrual and reproductive function after treatment with combination chemotherapy for malignant ovarian germ cell tumors. J Clin Oncol 6 (2): 270-5, 1988.2828558 88117650
Gershenson DM, Morris M, Cangir A, et al.: Treatment of malignant germ cell tumors of the ovary with bleomycin, etoposide, and cisplatin. J Clin Oncol 8 (4): 715-20, 1990.1690272 90188473
Mitchell PL, Al-Nasiri N, A'Hern R, et al.: Treatment of nondysgerminomatous ovarian germ cell tumors: an analysis of 69 cases. Cancer 85 (10): 2232-44, 1999.10326703 99256635
Dicken BJ, Billmire DF, Rich B, et al.: Utility of frozen section in pediatric and adolescent malignant ovarian nonseminomatous germ cell tumors: A report from the children's oncology group. Gynecol Oncol 166 (3): 476-480, 2022.35750503
Billmire DF, Cullen JW, Rescorla FJ, et al.: Surveillance after initial surgery for pediatric and adolescent girls with stage I ovarian germ cell tumors: report from the Children's Oncology Group. J Clin Oncol 32 (5): 465-70, 2014.24395845
Palenzuela G, Martin E, Meunier A, et al.: Comprehensive staging allows for excellent outcome in patients with localized malignant germ cell tumor of the ovary. Ann Surg 248 (5): 836-41, 2008.18948812
Billmire D, Vinocur C, Rescorla F, et al.: Outcome and staging evaluation in malignant germ cell tumors of the ovary in children and adolescents: an intergroup study. J Pediatr Surg 39 (3): 424-9; discussion 424-9, 2004.15017564
Williams SD: Ovarian germ cell tumors: an update. Semin Oncol 25 (3): 407-13, 1998.9633853
Williams S, Blessing JA, Liao SY, et al.: Adjuvant therapy of ovarian germ cell tumors with cisplatin, etoposide, and bleomycin: a trial of the Gynecologic Oncology Group. J Clin Oncol 12 (4): 701-6, 1994.7512129 94201785

## Treatment of Malignant Extragonadal Extracranial GCTs in Children

In initial reports, children with extragonadal malignant germ cell tumors (GCTs), particularly those with advanced-stage (stage III or stage IV) disease, had the highest risk of treatment failure for any GCT presentation.[1,2] Subsequently, an analysis of data from 25 years of pediatric GCT studies in the United States and United Kingdom reported that children younger than 11 years with extragonadal stage III and stage IV GCTs had an event-free survival (EFS) rate of 85%, and adolescents with stage III and stage IV extragonadal disease had poorer outcomes (expected EFS rate, <70%).[3]

The role of surgery at diagnosis for extragonadal tumors depends on patient age and tumor site, and treatment must be individualized. Depending on the clinical setting, the appropriate surgical approach may be primary resection, biopsy before chemotherapy, or no surgery (e.g., for a mediastinal primary tumor in a patient with a compromised airway and elevated tumor markers). An appropriate strategy may be biopsy at diagnosis followed by chemotherapy and subsequent surgery in selected patients who have residual masses after chemotherapy.

### Standard Treatment Options for Malignant Extragonadal Extracranial GCTs in Prepubertal Children

Standard treatment options for malignant extragonadal extracranial GCTs in prepubertal children include the following:

1. Surgery and chemotherapy (stages I–IV).
2. Biopsy followed by chemotherapy with or without surgery (stages III and IV).

The treatment of malignant extragonadal extracranial GCTs also depends on the site of disease. For more information, see the Site-specific considerations for malignant extragonadal extracranial GCTs section.

#### Surgery and chemotherapy (stages I–IV)

Surgery and chemotherapy with four cycles of standard cisplatin, etoposide, and bleomycin (PEb) is one treatment option. Patients with stage I and stage II disease treated with this regimen had an overall survival (OS) rate of 90%, suggesting that a reduction in therapy may be considered.[1,4] Patients with stage III and stage IV disease had OS rates of higher than 80%.[1]

An alternative treatment option is surgery and chemotherapy with carboplatin, etoposide, and bleomycin (JEb).[5] Stage III and stage IV patients treated with JEb had an OS rate similar to that with the PEb regimen.[5]

Two pediatric intergroup trials for patients with high-risk disease investigated the use of high-dose cisplatin (200 mg/m^2^) in a randomized study and a subsequent study that added amifostine to high-dose cisplatin.[1] No benefit in OS was observed, and 75% of patients required hearing aids. A Children's Oncology Group (COG) trial of patients with high-risk disease investigated the addition of cyclophosphamide to standard-dose PEb. The addition of cyclophosphamide was feasible and well tolerated at all dose levels, but there was no evidence that adding cyclophosphamide improved efficacy.[6]

#### Biopsy followed by chemotherapy with or without surgery (stages III and IV)

While outcomes have improved remarkably since the advent of platinum-based chemotherapy and the use of a multidisciplinary treatment approach, complete resection before chemotherapy may be possible in some patients without major morbidity.[1,5]

However, for patients with locally advanced sacrococcygeal tumors, mediastinal tumors, or large pelvic tumors, tumor biopsy followed by preoperative chemotherapy may facilitate subsequent complete tumor resection and improve ultimate patient outcome. No decrease in OS has been noted for patients with malignant extragonadal GCTs who have had delayed resection after receiving chemotherapy.[5,7-9]

#### Site-specific considerations for malignant extragonadal extracranial GCTs

The treatment of malignant extragonadal extracranial GCTs depends in part on the site of disease.

##### Sacrococcygeal site

Sacrococcygeal GCTs are common extragonadal tumors that occur in very young children, predominantly young females.[10] The tumors are usually diagnosed at birth, when large external lesions predominate (usually mature or immature teratomas), or later in the first years of life, when presacral lesions with higher malignancy rates predominate.[10]

Malignant sacrococcygeal tumors are usually very advanced at diagnosis. Two-thirds of patients have locoregional disease, and metastases are present in 50% of patients.[8,11,12] Because of their advanced stage at presentation, the management of sacrococcygeal tumors requires a multimodal approach with platinum-based chemotherapy followed by delayed tumor resection.

Platinum-based therapies, with either cisplatin or carboplatin, are the cornerstone of treatment. The PEb regimen or the JEb regimen produces EFS rates of 85%.[8,9] Surgery may be facilitated by preoperative chemotherapy. In any patient with a sacrococcygeal GCT, resection of the coccyx is mandatory.[8,9]

Completeness of surgical resection is an important prognostic factor, as shown in the following circumstances:[8,9,13]

- Resected tumors with negative microscopic margins: EFS rates higher than 90%.
- Resected tumors with microscopic margins: EFS rates of 75% to 85%.
- Resected tumors with macroscopic residual disease: EFS rates lower than 40%.

##### Mediastinal site

Mediastinal GCTs account for 15% to 20% of malignant extragonadal extracranial GCTs in children.[5] The histology of mediastinal GCT is dependent on age, with teratomas predominating among infants and yolk sac tumors predominating among children aged 1 to 4 years.[7]

Prepubertal children with mediastinal malignant teratomas are treated with tumor resection, which is curative in almost all patients.[7] Children with stage I to stage III nonmetastatic mediastinal GCTs who receive cisplatin-based chemotherapy have 5-year EFS and OS rates of 90%. However, patients with stage IV mediastinal tumors have EFS rates closer to 80%.[3,5,7]; [14][Level of evidence C1]

##### Retroperitoneal site

Malignant GCTs located in the retroperitoneum or abdomen usually present in children younger than 5 years. Most of these tumors are advanced stage and locally unresectable at diagnosis.[15] A limited biopsy followed by platinum-based chemotherapy to shrink tumor bulk can lead to complete tumor resection in most patients. Despite the advanced-stage disease in most patients, the 6-year EFS rate using PEb was 83% in the Pediatric Oncology Group/Children's Cancer Group intergroup study.[15]

##### Head and neck site

Although rare, benign and malignant GCTs can occur in the head and neck region, especially in infants. The airway is often threatened. Surgery for nonmalignant tumors and surgery plus chemotherapy for malignant tumors can be curative.[16][Level of evidence C2]

### Standard Treatment Options for Malignant Extragonadal Extracranial GCTs in Postpubertal Children

In a study of prognostic factors in pediatric extragonadal malignant GCTs, age older than 12 years was the most important prognostic factor. In a multivariate analysis, children aged 12 years and older with thoracic tumors had six times the risk of death compared with children younger than 12 years with primary nonthoracic tumors.[17] In a subsequent meta-analysis, adolescents with stage III and stage IV extragonadal disease had poor outcomes (expected EFS rate, <70%).[3] Extragonadal disease of any stage is considered a poor risk factor in adolescents and young adults.[18]

Standard treatment options for malignant extragonadal extracranial GCTs in postpubertal children include the following:

1. Surgery.
2. Chemotherapy (four cycles of bleomycin, etoposide, and cisplatin [BEP]).
3. Chemotherapy followed by surgery to remove residual tumor.
4. Enrollment in a clinical trial.

As with sacrococcygeal tumors, primary chemotherapy is usually necessary to facilitate surgical resection of mediastinal GCTs, and the completeness of resection is a very important prognostic indicator.[7,19] Survival rates for the older adolescent and young adult population with mediastinal tumors are generally lower than 60%.[3,17,20-22]; [23][Level of evidence C1]

Patients with a malignant mediastinal primary tumor and extracranial metastases are at the highest risk of developing brain metastases and are monitored closely for signs and symptoms of central nervous system involvement.[24][Level of evidence C1] For more information about the treatment of adult patients, see Extragonadal Germ Cell Tumors Treatment.

### Treatment Options Under Clinical Evaluation for Malignant Extragonadal Extracranial GCTs

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

1. AGCT1531 (NCT03067181) (https://www.cancer.gov/clinicaltrials/NCT03067181) (Active Surveillance, Bleomycin, Carboplatin, Etoposide, or Cisplatin in Treating Pediatric and Adult Patients with GCTs): The aim of this trial is to reduce toxicity and maintain efficacy of treatment for patients with standard-risk GCTs. Patients with stage I malignant GCTs (low risk, age 0–50 years) will be treated with surgery and observation. Patients with intermediate-risk GCTs will be randomly assigned to receive cisplatin or carboplatin and bleomycin and etoposide. Children younger than 11 years will receive bleomycin with each cycle, and those aged 11 years and older will receive weekly bleomycin. Patients with pure seminoma or dysgerminoma are excluded from the trial.

#### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Cushing B, Giller R, Cullen JW, et al.: Randomized comparison of combination chemotherapy with etoposide, bleomycin, and either high-dose or standard-dose cisplatin in children and adolescents with high-risk malignant germ cell tumors: a pediatric intergroup study--Pediatric Oncology Group 9049 and Children's Cancer Group 8882. J Clin Oncol 22 (13): 2691-700, 2004.15226336
Baranzelli MC, Kramar A, Bouffet E, et al.: Prognostic factors in children with localized malignant nonseminomatous germ cell tumors. J Clin Oncol 17 (4): 1212, 1999.10561181 20029910
Frazier AL, Hale JP, Rodriguez-Galindo C, et al.: Revised risk classification for pediatric extracranial germ cell tumors based on 25 years of clinical trial data from the United Kingdom and United States. J Clin Oncol 33 (2): 195-201, 2015.25452439
Rogers PC, Olson TA, Cullen JW, et al.: Treatment of children and adolescents with stage II testicular and stages I and II ovarian malignant germ cell tumors: A Pediatric Intergroup Study--Pediatric Oncology Group 9048 and Children's Cancer Group 8891. J Clin Oncol 22 (17): 3563-9, 2004.15337806
Mann JR, Raafat F, Robinson K, et al.: The United Kingdom Children's Cancer Study Group's second germ cell tumor study: carboplatin, etoposide, and bleomycin are effective treatment for children with malignant extracranial germ cell tumors, with acceptable toxicity. J Clin Oncol 18 (22): 3809-18, 2000.11078494 20530736
Malogolowkin MH, Krailo M, Marina N, et al.: Pilot study of cisplatin, etoposide, bleomycin, and escalating dose cyclophosphamide therapy for children with high risk germ cell tumors: a report of the children's oncology group (COG). Pediatr Blood Cancer 60 (10): 1602-5, 2013.23703725
Schneider DT, Calaminus G, Reinhard H, et al.: Primary mediastinal germ cell tumors in children and adolescents: results of the German cooperative protocols MAKEI 83/86, 89, and 96. J Clin Oncol 18 (4): 832-9, 2000.10673525 20139488
Göbel U, Schneider DT, Calaminus G, et al.: Multimodal treatment of malignant sacrococcygeal germ cell tumors: a prospective analysis of 66 patients of the German cooperative protocols MAKEI 83/86 and 89. J Clin Oncol 19 (7): 1943-50, 2001.11283126
Rescorla F, Billmire D, Stolar C, et al.: The effect of cisplatin dose and surgical resection in children with malignant germ cell tumors at the sacrococcygeal region: a pediatric intergroup trial (POG 9049/CCG 8882). J Pediatr Surg 36 (1): 12-7, 2001.11150431 20584362
Altman RP, Randolph JG, Lilly JR: Sacrococcygeal teratoma: American Academy of Pediatrics Surgical Section Survey-1973. J Pediatr Surg 9 (3): 389-98, 1974.4843993
Rescorla FJ, Sawin RS, Coran AG, et al.: Long-term outcome for infants and children with sacrococcygeal teratoma: a report from the Childrens Cancer Group. J Pediatr Surg 33 (2): 171-6, 1998.9498381
Calaminus G, Schneider DT, Bökkerink JP, et al.: Prognostic value of tumor size, metastases, extension into bone, and increased tumor marker in children with malignant sacrococcygeal germ cell tumors: a prospective evaluation of 71 patients treated in the German cooperative protocols Maligne Keimzelltumoren (MAKEI) 83/86 and MAKEI 89. J Clin Oncol 21 (5): 781-6, 2003.12610174
Egler RA, Gosiengfiao Y, Russell H, et al.: Is surgical resection and observation sufficient for stage I and II sacrococcygeal germ cell tumors? A case series and review. Pediatr Blood Cancer 64 (5): , 2017.27786428
De Pasquale MD, Crocoli A, Conte M, et al.: Mediastinal Germ Cell Tumors in Pediatric Patients: A Report From the Italian Association of Pediatric Hematology and Oncology. Pediatr Blood Cancer 63 (5): 808-12, 2016.26766550
Billmire D, Vinocur C, Rescorla F, et al.: Malignant retroperitoneal and abdominal germ cell tumors: an intergroup study. J Pediatr Surg 38 (3): 315-8; discussion 315-8, 2003.12632341
Bernbeck B, Schneider DT, Bernbeck B, et al.: Germ cell tumors of the head and neck: report from the MAKEI Study Group. Pediatr Blood Cancer 52 (2): 223-6, 2009.18937314
Marina N, London WB, Frazier AL, et al.: Prognostic factors in children with extragonadal malignant germ cell tumors: a pediatric intergroup study. J Clin Oncol 24 (16): 2544-8, 2006.16735707
International Germ Cell Consensus Classification: a prognostic factor-based staging system for metastatic germ cell cancers. International Germ Cell Cancer Collaborative Group. J Clin Oncol 15 (2): 594-603, 1997.9053482 97178749
Billmire D, Vinocur C, Rescorla F, et al.: Malignant mediastinal germ cell tumors: an intergroup study. J Pediatr Surg 36 (1): 18-24, 2001.11150432 20584363
Vuky J, Bains M, Bacik J, et al.: Role of postchemotherapy adjunctive surgery in the management of patients with nonseminoma arising from the mediastinum. J Clin Oncol 19 (3): 682-8, 2001.11157018 21104116
Ganjoo KN, Rieger KM, Kesler KA, et al.: Results of modern therapy for patients with mediastinal nonseminomatous germ cell tumors. Cancer 88 (5): 1051-6, 2000.10699894 20164351
Bokemeyer C, Nichols CR, Droz JP, et al.: Extragonadal germ cell tumors of the mediastinum and retroperitoneum: results from an international analysis. J Clin Oncol 20 (7): 1864-73, 2002.11919246 21917884
Kang CH, Kim YT, Jheon SH, et al.: Surgical treatment of malignant mediastinal nonseminomatous germ cell tumor. Ann Thorac Surg 85 (2): 379-84, 2008.18222229
Göbel U, von Kries R, Teske C, et al.: Brain metastases during follow-up of children and adolescents with extracranial malignant germ cell tumors: risk adapted management decision tree analysis based on data of the MAHO/MAKEI-registry. Pediatr Blood Cancer 60 (2): 217-23, 2013.22693072

## Treatment of Recurrent Malignant GCTs in Children

Only a small number of children and adolescents with extracranial germ cell tumors (GCTs) have a recurrence.[1,2] Reports regarding the treatment and outcome of these children are based on small studies.[3]

Treatment options for recurrent pediatric GCTs are modeled after treatment options in adult clinical trials. Information about ongoing National Cancer Institute (NCI)–supported clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Standard Treatment Options for Recurrent Malignant GCTs in Children

Standard treatment options for recurrent childhood malignant GCTs include the following:

1. Surgery alone.
2. Surgery with neoadjuvant or adjuvant chemotherapy.

For information about salvage therapy after observation for patients with stage I disease, see the following sections:

- Surgery and Observation section of the Treatment Option Overview for Childhood Extracranial GCTs section.
- Surgery and observation (stage I) section of the Malignant testicular GCTs in prepubertal males section.
- Surgery and observation for prepubertal females (stage I following strict surgical staging guidelines) section of the Malignant nongerminomatous ovarian GCTs section.

#### Surgery with neoadjuvant or adjuvant chemotherapy

Reports of salvage treatment strategies used in adult recurrent GCTs include larger numbers of patients, but the differences between children and adults regarding the location of the primary GCT site, pattern of relapse, and the biology of childhood GCTs may limit the applicability of adult salvage approaches to children. In adults with recurrent GCTs, several chemotherapy combinations (most include the addition of paclitaxel and ifosfamide to a platinum compound) have achieved relatively good disease-free status.[4-9] A combination of paclitaxel and gemcitabine has demonstrated activity in adults with testicular GCTs who relapsed after high-dose chemotherapy and hematopoietic stem cell transplant (HSCT).[10]

Among children with benign sacrococcygeal tumors who recur, a malignant component may be present at the primary tumor site. For these children, complete surgical resection of the recurrent tumor and coccyx (if not done originally) is the basis of salvage treatment. Preoperative chemotherapy with cisplatin, etoposide, and bleomycin (PEb) may assist the surgical resection. In patients who had a malignant sacrococcygeal tumor that recurred after PEb treatment, surgery and additional chemotherapy may be warranted.[3]

In a phase II Children’s Oncology Group (COG) trial (AGCT0521 [NCT00467051] (https://www.cancer.gov/clinicaltrials/NCT00467051)), 20 patients younger than 21 years who relapsed after PEb therapy received two cycles of paclitaxel, ifosfamide, and carboplatin (TIC). Responses were then assessed by a combination of Response Evaluation Criteria In Solid Tumors (RECIST) criteria and marker decline. Eight patients had partial responses, ten patients had stable disease, and two patients had progressive disease. This chemotherapy regimen produced a combined response rate of 44%.[11]

### Nonstandard Treatment Options for Recurrent Malignant GCTs in Children

#### High-dose (HD) chemotherapy and hematopoietic stem cell rescue

The role of HD chemotherapy and hematopoietic stem cell rescue for recurrent pediatric GCTs is not established, despite anecdotal reports. In one European series, 10 of 23 children with relapsed extragonadal GCTs achieved long-term disease-free survival (median follow-up, 66 months) after receiving HD chemotherapy with stem cell support.[12] Additional study in children and adolescents is needed. For more information about transplant, see Pediatric Autologous Hematopoietic Stem Cell Transplant and Pediatric Hematopoietic Stem Cell Transplant and Cellular Therapy for Cancer.

HD chemotherapy with autologous stem cell rescue has been explored as a treatment for adults with recurrent testicular GCTs. HD chemotherapy plus hematopoietic stem cell rescue has been reported to cure adult patients with relapsed testicular GCTs, even as third-line therapy and in cisplatin-refractory patients.[10,13-15] A small study also demonstrated efficacy in adolescents and women with ovarian GCTs.[16][Level of evidence C1] While some studies support this approach,[10,14,15,17,18] others do not.[19,20] Salvage attempts using HD chemotherapy regimens may be of little benefit if the patient is not clinically disease free at the time of HSCT.[13,21]

#### Radiation therapy followed by surgery (for brain metastases)

In a very small pediatric study, patients with nongerminomatous brain metastases responded to radiation therapy. In the German Maligne Keimzelltümoren (MAKEI) studies, radiation therapy and surgery for patients with brain metastases provided palliation and occasional long-term survival.[22,23][Level of evidence C1] A meta-analysis showed that radiation therapy did not improve outcome compared with surgery and radiation. However, the number of patients treated with radiation therapy was too small to accurately assess outcome.[24]

### Treatment Options Under Clinical Evaluation for Recurrent Malignant GCTs in Children and Adolescents

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

#### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Mann JR, Raafat F, Robinson K, et al.: The United Kingdom Children's Cancer Study Group's second germ cell tumor study: carboplatin, etoposide, and bleomycin are effective treatment for children with malignant extracranial germ cell tumors, with acceptable toxicity. J Clin Oncol 18 (22): 3809-18, 2000.11078494 20530736
Cushing B, Giller R, Cullen JW, et al.: Randomized comparison of combination chemotherapy with etoposide, bleomycin, and either high-dose or standard-dose cisplatin in children and adolescents with high-risk malignant germ cell tumors: a pediatric intergroup study--Pediatric Oncology Group 9049 and Children's Cancer Group 8882. J Clin Oncol 22 (13): 2691-700, 2004.15226336
Schneider DT, Wessalowski R, Calaminus G, et al.: Treatment of recurrent malignant sacrococcygeal germ cell tumors: analysis of 22 patients registered in the German protocols MAKEI 83/86, 89, and 96. J Clin Oncol 19 (7): 1951-60, 2001.11283127
Loehrer PJ, Gonin R, Nichols CR, et al.: Vinblastine plus ifosfamide plus cisplatin as initial salvage therapy in recurrent germ cell tumor. J Clin Oncol 16 (7): 2500-4, 1998.9667270 98329844
Motzer RJ, Sheinfeld J, Mazumdar M, et al.: Paclitaxel, ifosfamide, and cisplatin second-line therapy for patients with relapsed testicular germ cell cancer. J Clin Oncol 18 (12): 2413-8, 2000.10856101
Hartmann JT, Einhorn L, Nichols CR, et al.: Second-line chemotherapy in patients with relapsed extragonadal nonseminomatous germ cell tumors: results of an international multicenter analysis. J Clin Oncol 19 (6): 1641-8, 2001.11250992
Kondagunta GV, Bacik J, Sheinfeld J, et al.: Paclitaxel plus Ifosfamide followed by high-dose carboplatin plus etoposide in previously treated germ cell tumors. J Clin Oncol 25 (1): 85-90, 2007.17194908
Schmoll HJ, Kollmannsberger C, Metzner B, et al.: Long-term results of first-line sequential high-dose etoposide, ifosfamide, and cisplatin chemotherapy plus autologous stem cell support for patients with advanced metastatic germ cell cancer: an extended phase I/II study of the German Testicular Cancer Study Group. J Clin Oncol 21 (22): 4083-91, 2003.14568987
Kondagunta GV, Bacik J, Bajorin D, et al.: Etoposide and cisplatin chemotherapy for metastatic good-risk germ cell tumors. J Clin Oncol 23 (36): 9290-4, 2005.16361627
Einhorn LH, Brames MJ, Juliar B, et al.: Phase II study of paclitaxel plus gemcitabine salvage chemotherapy for germ cell tumors after progression following high-dose chemotherapy with tandem transplant. J Clin Oncol 25 (5): 513-6, 2007.17290059
Pashankar F, Frazier AL, Krailo M, et al.: Treatment of refractory germ cell tumors in children with paclitaxel, ifosfamide, and carboplatin: A report from the Children's Oncology Group AGCT0521 study. Pediatr Blood Cancer 65 (8): e27111, 2018.29697191
De Giorgi U, Rosti G, Slavin S, et al.: Salvage high-dose chemotherapy for children with extragonadal germ-cell tumours. Br J Cancer 93 (4): 412-7, 2005.16106248
Einhorn LH, Williams SD, Chamness A, et al.: High-dose chemotherapy and stem-cell rescue for metastatic germ-cell tumors. N Engl J Med 357 (4): 340-8, 2007.17652649
Motzer RJ, Mazumdar M, Sheinfeld J, et al.: Sequential dose-intensive paclitaxel, ifosfamide, carboplatin, and etoposide salvage therapy for germ cell tumor patients. J Clin Oncol 18 (6): 1173-80, 2000.10715285 20181879
Rick O, Bokemeyer C, Beyer J, et al.: Salvage treatment with paclitaxel, ifosfamide, and cisplatin plus high-dose carboplatin, etoposide, and thiotepa followed by autologous stem-cell rescue in patients with relapsed or refractory germ cell cancer. J Clin Oncol 19 (1): 81-8, 2001.11134198
Meisel JL, Woo KM, Sudarsan N, et al.: Development of a risk stratification system to guide treatment for female germ cell tumors. Gynecol Oncol 138 (3): 566-72, 2015.26115974
Bhatia S, Abonour R, Porcu P, et al.: High-dose chemotherapy as initial salvage chemotherapy in patients with relapsed testicular cancer. J Clin Oncol 18 (19): 3346-51, 2000.11013274 20469575
Feldman DR, Sheinfeld J, Bajorin DF, et al.: TI-CE high-dose chemotherapy for patients with previously treated germ cell tumors: results and prognostic factor analysis. J Clin Oncol 28 (10): 1706-13, 2010.20194867
Beyer J, Rick O, Siegert W, et al.: Salvage chemotherapy in relapsed germ cell tumors. World J Urol 19 (2): 90-3, 2001.11374323
Beyer J, Kramar A, Mandanas R, et al.: High-dose chemotherapy as salvage treatment in germ cell tumors: a multivariate analysis of prognostic variables. J Clin Oncol 14 (10): 2638-45, 1996.8874322 97028308
Rick O, Bokemeyer C, Weinknecht S, et al.: Residual tumor resection after high-dose chemotherapy in patients with relapsed or refractory germ cell cancer. J Clin Oncol 22 (18): 3713-9, 2004.15365067
Göbel U, von Kries R, Teske C, et al.: Brain metastases during follow-up of children and adolescents with extracranial malignant germ cell tumors: risk adapted management decision tree analysis based on data of the MAHO/MAKEI-registry. Pediatr Blood Cancer 60 (2): 217-23, 2013.22693072
Göbel U, Schneider DT, Teske C, et al.: Brain metastases in children and adolescents with extracranial germ cell tumor - data of the MAHO/MAKEI-registry. Klin Padiatr 222 (3): 140-4, 2010.20514616
Feldman DR, Lorch A, Kramar A, et al.: Brain Metastases in Patients With Germ Cell Tumors: Prognostic Factors and Treatment Options--An Analysis From the Global Germ Cell Cancer Group. J Clin Oncol 34 (4): 345-51, 2016.26460295

## Latest Updates to This Summary (11/05/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood extracranial germ cell tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Extracranial Germ Cell Tumors Treatment are:

- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- D. Williams Parsons, MD, PhD (Texas Children's Hospital)
- Stephen J. Shochat, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Extracranial Germ Cell Tumors Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/extracranial-germ-cell/hp/germ-cell-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389316]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).